# Adjustment to Cancer: Anxiety and Distress (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about normal adjustment issues, and the pathophysiology and treatment of psychosocial distress and the adjustment disorders. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Studies of the prevalence of mental disorders in patients with cancer [1,2] show that most patients do not meet the diagnostic criteria for any specific mental disorder. However, many do experience a variety of difficult emotional responses.[3]

Psychosocial distress exists on a continuum (see the figure below), ranging from normal adjustment issues through the adjustment disorders of the fifth edition of the Diagnostic and Statistical Manual of Mental Disorders.[4] This summary focuses primarily on the milder end of this continuum and includes the following:[5]

- Normal adjustment issues.
- Psychosocial distress.
- Adjustment disorders.
- Cancer-related anxiety disorders.

For more information, see Depression and Cancer-Related Post-Traumatic Stress.

Anxiety often appears at various times during cancer screening, diagnosis, treatment, and recurrence. It can also affect the health behaviors of people at risk of cancer, contributing to actions that might prevent cancer.[6-8] For example, when women with high levels of anxiety learn that they have a genetically higher risk of developing breast cancer than they had previously believed, they might perform breast self-examination less frequently.[9]

For patients undergoing cancer treatment, anxiety may also heighten the expectancy of pain,[10-12] other symptoms of distress, and sleep disturbances, and it can be a major factor in anticipatory nausea and vomiting. Regardless of severity, anxiety can substantially interfere with the quality of life of cancer patients and their families, and should be evaluated and treated.[13-16]

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Derogatis LR, Morrow GR, Fetting J, et al.: The prevalence of psychiatric disorders among cancer patients. JAMA 249 (6): 751-7, 1983.6823028 83112345
Massie MJ, Holland JC: Overview of normal reactions and prevalence of psychiatric disorders. In: Holland JC, Rowland JH, eds.: Handbook of Psychooncology: Psychological Care of the Patient With Cancer. Oxford University Press, 1989, pp 273-82.
Bisson JI, Chubb HL, Bennett S, et al.: The prevalence and predictors of psychological distress in patients with early localized prostate cancer. BJU Int 90 (1): 56-61, 2002.12081771 22076799
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Distress Management. Version 1.2025. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2024. Available online with free registration (https://www.nccn.org/professionals/physician_gls/pdf/distress.pdf). Last accessed Feb. 26, 2025.
Lauver D, Ho CH: Explaining delay in care seeking for breast cancer symptoms. J Appl Soc Psychol 23 (21): 1806-25, 1993.
MacFarlane ME, Sony SD: Women, breast lump discovery, and associated stress. Health Care Women Int 13 (1): 23-32, 1992 Jan-Mar.1556029 92210438
Gram IT, Slenker SE: Cancer anxiety and attitudes toward mammography among screening attenders, nonattenders, and women never invited. Am J Public Health 82 (2): 249-51, 1992.1739156 92152348
Lerman C, Kash K, Stefanek M: Younger women at increased risk for breast cancer: perceived risk, psychological well-being, and surveillance behavior. J Natl Cancer Inst Monogr (16): 171-6, 1994.7999461 95092425
Velikova G, Selby PJ, Snaith PR, et al.: The relationship of cancer pain to anxiety. Psychother Psychosom 63 (3-4): 181-4, 1995.7624464 95350311
Glover J, Dibble SL, Dodd MJ, et al.: Mood states of oncology outpatients: does pain make a difference? J Pain Symptom Manage 10 (2): 120-8, 1995.7730684 95248160
Ferrell-Torry AT, Glick OJ: The use of therapeutic massage as a nursing intervention to modify anxiety and the perception of cancer pain. Cancer Nurs 16 (2): 93-101, 1993.8477405 93238213
Davis-Ali SH, Chesler MA, Chesney BK: Recognizing cancer as a family disease: worries and support reported by patients and spouses. Soc Work Health Care 19 (2): 45-65, 1993.8153845 94204871
Dahlquist LM, Czyzewski DI, Copeland KG, et al.: Parents of children newly diagnosed with cancer: anxiety, coping, and marital distress. J Pediatr Psychol 18 (3): 365-76, 1993.8340845 93340894
Payne SA: A study of quality of life in cancer patients receiving palliative chemotherapy. Soc Sci Med 35 (12): 1505-9, 1992.1283035 93134423
Nakamura ZM, Deal AM, Nyrop KA, et al.: Serial Assessment of Depression and Anxiety by Patients and Providers in Women Receiving Chemotherapy for Early Breast Cancer. Oncologist 26 (2): 147-156, 2021.32946156

## Definitions

To effectively match the needs of cancer patients with treatment interventions, health care professionals must be able to distinguish the periodic difficulties that characterize normal adjustment from more-serious mental disorders. To assist in this evaluation, health care professionals need to understand the distinctions among a variety of related concepts.

Normal adjustment: Adjustment or psychosocial adaptation to cancer has been defined as an ongoing process in which the individual patient tries to manage emotional distress, solve specific cancer-related problems, and gain mastery of or control over cancer-related life events.[1-3] Adjustment to cancer is not a unitary, single event but rather a series of ongoing coping responses to the many tasks associated with living with cancer. For more information, see the Normal Adjustment section.

Psychosocial distress: Distress in cancer has been defined as “a multifactorial unpleasant experience of a psychological (i.e., cognitive, behavioral, emotional), social, spiritual, and/or physical nature that may interfere with one's ability to cope effectively with cancer, its physical symptoms, and its treatment. Distress extends along a continuum, ranging from common normal feelings of vulnerability, sadness, and fears to problems that can become disabling, such as depression, anxiety, panic, social isolation, and existential and spiritual crisis.”[4,5] For more information, see the Psychosocial Distress section.

Adjustment disorders: The adjustment disorders, a diagnostic category of the fifth edition of the American Psychiatric Association’s Diagnostic and Statistical Manual of Mental Disorders (DSM-5),[6] are characterized by the presence of clinically significant emotional or behavioral symptoms that result in marked distress or significant impairment in social, occupational, or other important areas of functioning. The symptoms occur in response to an identifiable psychosocial stressor (e.g., cancer diagnosis), are less severe than in diagnosable mental disorders such as major depressive disorder or generalized anxiety disorder, and do not represent normal bereavement. For more information, see The Adjustment Disorders section.

Anxiety disorders: Anxiety disorders are a group of mental disorders whose common symptoms include excessive anxiety, worry, fear, apprehension, and/or dread. Although some anxiety can be adaptive—particularly in response to stressors such as cancer—anxiety disorders are excessive, unwarranted, often illogical fears, worry, and dread. Types of anxiety disorders in the DSM-5 include generalized anxiety disorder, panic disorder, agoraphobia, social anxiety disorder, specific phobia, obsessive-compulsive disorder, and post-traumatic stress disorder.[6] For more information, see the Anxiety Disorders: Description and Etiology section.

The distress continuum. Psychosocial distress exists on a continuum that ranges from normal adjustment issues to syndromes that meet the full diagnostic criteria for a mental disorder.

Diagram of the distress continuum showing that psychosocial distress ranges from normal adjustment issues, to adjustment disorders, to a subthreshold to mental disorders, to diagnosable mental disorders (e.g., major depressive disorder).

### References

Brennan J: Adjustment to cancer - coping or personal transition? Psychooncology 10 (1): 1-18, 2001 Jan-Feb.11180573 21110805
Folkman S, Greer S: Promoting psychological well-being in the face of serious illness: when theory, research and practice inform each other. Psychooncology 9 (1): 11-9, 2000 Jan-Feb.10668055 20134756
Nicholas DR, Veach TA: The psychosocial assessment of the adult cancer patient. Prof Psychol 31 (2): 206-15, 2000.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Distress Management. Version 1.2025. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2024. Available online with free registration (https://www.nccn.org/professionals/physician_gls/pdf/distress.pdf). Last accessed Feb. 26, 2025.
Fashoyin-Aje LA, Martinez KA, Dy SM: New patient-centered care standards from the commission on cancer: opportunities and challenges. J Support Oncol 10 (3): 107-11, 2012 May-Jun.22440532
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.

## Risk Factors: Prevalence and Predictors of Distress

A few studies have investigated the prevalence of distress, as measured by the National Comprehensive Cancer Network Distress Thermometer (DT) or other screening instruments, such as the Brief Symptom Inventory.[1- 6] Prevalence rates in patients with cancer range from 22% to 58%.[7]

Pooled results from multiple studies suggest that approximately 40% of cancer patients report significant distress.[7] Patients with lung, pancreatic, and brain cancers seem more likely to report distress, but in general, the type of cancer is only modestly associated with distress. Across different cancer types, stronger predictors of distress include:[7]

- Disability.
- Poorer quality of life.
- Ongoing, unmet psychosocial needs.

Regarding the prevalence of distress, one study of 236 women newly diagnosed with breast cancer (awaiting their initial consultation with a surgical oncologist) found that 41% reported distress scores higher than 5 on the DT. In this same group of women, 11% reported symptoms suggestive of major depression, and 10% reported symptoms of post-traumatic stress.[8]

A few predictors of distress have been identified. In a large sample (N = 380) of patients with mixed cancer diagnoses, those reporting a score of 4 or higher on the DT were more likely to be women; to have poorer functional performance (self-reported Karnofsky Performance Scale); and to have reported (on a problem checklist that accompanies the DT) problems with housing, dealing with children, dealing with a partner, depression, fears, nervousness, sadness, worry, and 14 of 20 physical ailments.[2]

As to predictors of posttreatment distress, a longitudinal study of 224 patients with head and neck cancer found that participants were more likely to experience an anxiety disorder immediately after treatment when they were diagnosed with advanced-stage cancer or had experienced childhood abuse.[9][Level of evidence: II] A longitudinal, observational study of 151 women with early-stage breast cancer found that physical symptoms and side effects experienced during treatment were predictive of posttreatment distress, amounting to 6% of the total 24% of variance accounted for.[10] In addition, demographic variables associated with this cancer-related posttreatment distress included the following:

- Younger age.
- Non-White racial status.
- Less formal education.

Clinical variables associated with posttreatment distress included the following:

- Having a mastectomy rather than lumpectomy.
- Receiving hormonal treatment.
- The presence of a diagnosable mental disorder at the time of recruitment into the study.

A comprehensive analysis of prospective studies investigated predictors of longer-term distress (≥12 months from the time of diagnosis).[4] This analysis found that a higher level of distress around the time of diagnosis is the most reliable predictor of longer-term heightened distress.

### References

Hoffman BM, Zevon MA, D'Arrigo MC, et al.: Screening for distress in cancer patients: the NCCN rapid-screening measure. Psychooncology 13 (11): 792-9, 2004.15386639
Jacobsen PB, Donovan KA, Trask PC, et al.: Screening for psychologic distress in ambulatory cancer patients. Cancer 103 (7): 1494-502, 2005.15726544
Akizuki N, Akechi T, Nakanishi T, et al.: Development of a brief screening interview for adjustment disorders and major depression in patients with cancer. Cancer 97 (10): 2605-13, 2003.12733160 22617776
Cook SA, Salmon P, Hayes G, et al.: Predictors of emotional distress a year or more after diagnosis of cancer: A systematic review of the literature. Psychooncology 27 (3): 791-801, 2018.29318702
Syrowatka A, Motulsky A, Kurteva S, et al.: Predictors of distress in female breast cancer survivors: a systematic review. Breast Cancer Res Treat 165 (2): 229-245, 2017.28553684
Trask PC, Paterson A, Riba M, et al.: Assessment of psychological distress in prospective bone marrow transplant patients. Bone Marrow Transplant 29 (11): 917-25, 2002.12080358
Carlson LE, Waller A, Mitchell AJ: Screening for distress and unmet needs in patients with cancer: review and recommendations. J Clin Oncol 30 (11): 1160-77, 2012.22412146
Hegel MT, Moore CP, Collins ED, et al.: Distress, psychiatric syndromes, and impairment of function in women with newly diagnosed breast cancer. Cancer 107 (12): 2924-31, 2006.17103381
Henry M, Sargi E, Frenkiel S, et al.: Longitudinal study indicating antecedent psychosocial vulnerability as predictor of anxiety disorders post-treatment in people with head and neck cancer. Psychooncology 30 (11): 1910-1919, 2021.34190381
Jim HS, Andrykowski MA, Munster PN, et al.: Physical symptoms/side effects during breast cancer treatment predict posttreatment distress. Ann Behav Med 34 (2): 200-8, 2007 Sep-Oct.17927558

## Screening and Assessment

Screening and assessment of psychosocial distress have been viewed as two distinct processes.[1,2] Screening is a rapid method of identifying patients with psychosocial distress and is typically conducted by non–mental-health professionals using brief self-report questionnaires to determine whether an individual needs referral for more-extensive assessment.[3] The psychosocial assessment of the cancer patient is a more in-depth clinical interview focused on factors relevant to coping and adaptation. Mental health professionals conduct this assessment interview to determine how well a patient is adjusting to cancer.[1]

### Self-Report Screening Instruments

Studies have tested the ability of single-item measures to accurately identify patients in distress.[4-8] In general, these ultrashort screening methods, such as the Distress Thermometer (DT), have demonstrated only modest overall accuracy. They are best for ruling out—but perform poorly at confirming—distress, anxiety, and depression.

#### The Distress Thermometer (DT)

The DT is a single-item, rapid-screening instrument from the National Comprehensive Cancer Network (NCCN). The DT asks patients to rate their distress on a scale of 0 to 10, with 10 being extreme distress. On an accompanying checklist, patients are asked to indicate what has been a problem for them in the past week.[9] Although many screening instruments have been tested with cancer patients, the DT has been the most widely investigated. The psychometric properties of the DT—a 0-to-10 visual analog scale in the form of a thermometer labeled No distress at 0 and Extreme distress at 10—have been investigated.[4]

The DT was found to have reasonable convergent and divergent validity when compared with two well-established, multidimensional symptom inventories. The DT has a moderate ability to accurately detect distress, as defined by scores indicative of caseness on the two-symptom inventories. In a systematic review and meta-analysis of 42 studies of distress in people with heterogenous cancer types, a DT cutoff score of 4 or higher was found to maximize the sensitivity and specificity of the measure for identifying distress.[10] The authors found that a score of 4 or greater on the DT was correlated with clinically significant symptoms of anxiety and depression, as measured by the Hospital Anxiety and Depression Scale.[10] A DT score of 4 or higher should prompt discussion with a member of the oncology team to determine the resource(s) or referral(s) that will best address the patient’s needs.[9,11] Of note, a multinational validation of the DT among 288 adolescents and young adults with cancer identified a DT score of 5 or greater as the optimal cutoff score in this age group.[12] However, additional research is needed to support these findings.

#### Other self-report screening instruments

Many other self-report questionnaires have been used as screening instruments (see Table 1). In general, they also are better for ruling out distress and perform poorly at confirming distress. Thus, most screening instruments will yield a high number of false-positive results and need to be followed by a more-extensive psychosocial assessment interview.

Table 1. Examples of Self-Report Screening Instruments Used to Identify Psychosocial Distress in Cancer Patients

Title | No. Items | Time (min) | Constructs Measured
Brief Symptom Inventory (BSI) [13] | 53 | 7–10 | Somatization, anxiety, interpersonal sensitivity, depression, hostility, phobic anxiety, paranoid ideation, psychoticism, and obsessive-compulsiveness
Brief Symptom Inventory-18 (BSI-18) [14] | 18 | 3–5 | Somatization, depression, anxiety, and general distress
Distress Thermometer (DT) and Problem List [2,15] | Varies | 2–3 | Distress and problems related to the distress
Functional Assessment of Chronic Illness Therapy (FACIT; formerly the Functional Assessment of Cancer Therapy [FACT]) [16] | 27 | 5–10 | 4 domains of quality of life: physical, functional, social/family, and emotional well-being
Hospital Anxiety and Depression Scale (HADS) [17-19] | 14 | 5–10 | Emotional-cognitive symptoms of clinical depression and anxiety without neurovegetative symptoms
Patient-Reported Outcomes Measurement Information System (PROMIS) screeners [20] | Up to 88 (8–15 per domain) | Varies | Clinical norms based on age, cancer stage, and cancer type across 8 domains (anxiety, depression, pain interference, fatigue, sleep disturbance, physical functioning, social functioning, and cognitive functioning); each domain can be given separately
Profile of Mood States (POMS) [21] | 65 | 10–25 | 6 mood states: anxiety, fatigue, confusion, depression, anger, and vigor
Zung Self-Rating Depression Scale [22] | 20 | 5–10 | Symptoms of depression

Self-report screening instruments must be scored, evaluated, and discussed with each patient. Triage—the process of communicating screening results, discussing each patient’s needs, and determining the best course of further action—is key to the successful use of screening. In fact, screening without availability of appropriate treatment resources is considered unethical. The primary oncology team (oncologist, nurse, palliative care specialist, social worker, and counselor) is responsible for successful triage. In some studies, a significant percentage of patients who report moderate to high levels of distress refuse further assessment.[23-26] The primary oncology team should consider how best to introduce the need for further psychosocial assessment.

The NCCN standards of care [9] suggest that distress rated as mild might result in a referral to a local self-help group or management by the primary oncology team only. Distress rated as moderate to severe warrants referral to other appropriate professionals (psychologists, psychiatrists, social workers, palliative care specialists, or pastoral counselors), depending on the nature of the distress.

### Psychosocial Assessment

When screening identifies distress, an assessment of psychosocial adaptation should follow. This assessment is typically a semistructured interview during which the professional evaluates how well an individual patient, a patient’s family, and other significant people in a patient’s life are adapting to the current demands of the illness. In general, this assessment process considers a wide variety of factors relevant to overall adaptation.[1] For more information, see the General Factors Influencing Adjustment section.

A successful transition from screening to assessment involves clear communication between the oncology team and the patient. Although there is no single best way to talk to patients about psychosocial needs, clinical experience suggests some important concepts. First, most patients will respond to the recommendations of health care professionals who exhibit trust, expertise, warmth, care, and concern.

Choice of words is important. Words that suggest the stigma of serious mental illness, such as psychiatric, psychological, mental disorder, maladjustment, or mental illness, should be avoided in favor of words such as distress, concerns, worries, uncertainties, or stressors from the illness or its treatment. Suggestions for word choice include the following:

- The questionnaire you filled out helps us to understand you as a whole person, and we want to provide the best care possible for you—physically, emotionally, socially, and spiritually.
- As you may realize, a serious illness can affect your quality of life in many ways—emotionally, socially, financially, and in regard to work, relationships, and energy. There is much more to cancer than the physical aspects, and we want to be sure we are addressing these other dimensions of your life.
- Your concerns and worries are understandable, given your illness and its treatment. We do not want to ignore the emotional, social, and spiritual aspects of your experience right now.
- We have found that many patients benefit greatly from a chance to talk further about their concerns with a health care professional (e.g., social worker, mental health professional, palliative care specialist, or pastoral counselor), and we would like to schedule that appointment for you.
- We suggest an interview that lasts about 45 minutes with a professional who will:
  - Listen closely to you.
  - Want to know about your experiences with your illness.
  - Ask about you, your family and friends, and other supporters.
  - Ask about how you have been adjusting to your illness and encourage you to continue (and give you feedback about) successful coping strategies you are already using.
  - Suggest additional ways to address your concerns.

### Model Screening Programs

Various comprehensive cancer centers have developed models for screening for psychosocial distress. Although there are notable differences, most models involve the following sequential steps:

- Screening administration.
- Scoring and evaluation.
- Referral.

Most screening for psychosocial distress focuses on the individual patient. However, some family-focused screening procedures are being developed.[27]

Administration of a screening instrument involves a 5- to 10-minute process in which a patient answers a series of simple, straightforward questions about distress, either orally or via a self-report paper or computer questionnaire. Answers are scored and evaluated based on previously determined criteria. If scores fall above the defined criteria, then a formal referral to the appropriate discipline (social work, psychology, psychiatry, palliative care, or pastoral care) is made. Distress management then begins with a more-comprehensive face-to-face psychosocial assessment interview [1] by a qualified health care professional appropriate to the issues identified.

The success of screening programs can be measured in terms of the following outcomes:

- Accurate identification of patients who are experiencing significant psychosocial distress.
- Improved referral of patients to appropriate health care professionals to address clinically relevant distress.
- Patient acceptance of such referrals.
- Improved patient-clinician communication, with frequent discussion of quality-of-life issues during patient visits.
- Decreased level of distress and improved quality of life resulting from the screening program.

Some empirical studies have evaluated the impact of structured screening programs using these outcomes. In most of these studies, the intervention included telephone follow-up of screening results with referrals or in-person discussions with clinicians, trained or untrained in screening. Study designs have differed in terms of screening tools (brief vs. comprehensive screening tools), intervention components (trained vs. untrained screening clinicians), and study outcomes. Study designs have also differed in their controls. For example, control groups in some studies did not undergo screening,[28] while others involved patient screening but with no results conveyed to clinicians.[29]

The results of these screening studies have been mixed, depending on the structure of the screening programs and the assessed outcomes. Two studies found no meaningful differences between control and intervention groups in distress, quality of life, or cancer needs.[28,29] Low patient acceptance of psychosocial referral services was one of the limitations identified in these studies.[29]

In one study, a subgroup of moderately to severely depressed patients showed a significant reduction in depression after the intervention,[29] while another study concluded that the best predictor of decreased anxiety/depression was referral to psychosocial services.[30] Another study showed the feasibility of implementing a personalized and computerized screening program in a large patient population (N = 3,133) at a tertiary cancer center.[31]

Given these mixed results, further empirical evaluation of the effectiveness of screening programs is necessary. The following examples illustrate the process.

Memorial Sloan-Kettering Cancer Center has experimented with the DT, which was modeled after tools used to measure pain.[9] The descriptive anchor points on the DT include the following:

- No distress at a rating of 0.
- Extreme distress at a rating of 10.

Patients are asked to rate the distress they experienced during the past week, including the day of the screening, on a scale of 0 to 10. Accompanying the DT is a problem checklist that helps identify potential sources of stress. The patient is asked to check the problems that are most relevant. Categories of problems include the following:

- Practical (e.g., housing, insurance, or transportation).
- Physical (e.g., pain, nausea, or fatigue).
- Social (e.g., partner, children, or friends).
- Emotional (e.g., worry, sadness, depression, or anger).
- Spiritual/religious (e.g., relating to God or loss of faith).

The primary oncology team (oncologist, nurse, palliative care specialist, and social worker) is responsible for administering this brief screening, evaluating a patient’s response, and arranging for a referral, when necessary. Preliminary testing of this procedure used a cutoff score of 4 or higher for requiring further evaluation. Initial needs assessments have shown that 20% to 62% of patients reported significant levels of distress.[9]

At Johns Hopkins Cancer Center, all new patients receive an 18-item version of the Brief Symptom Inventory),[14] which lists 18 problems people may experience (e.g., feeling faint or dizzy, having no interest in things, loneliness, or nausea or upset stomach). Patients are asked how much they were distressed by each of the 18 problems during the past 7 days, including the day of the screening. The automated procedure uses clerical and support staff to distribute and retrieve the inventory during the first or second visit.[2] The professional staff is involved when offering further services. Patients screened as having high levels of distress are referred to a social worker for immediate follow-up. Those screened as having low levels of distress are referred to the psychosocial orientation program, a structured educational program designed to enhance patient adaptation by providing information about a range of psychosocial programs (e.g., disease-specific support groups or psychoeducational presentations).

The Oncology Symptom Control Research group at Community Cancer Care typically screens all incoming patients with the Zung Self-Rating Depression Scale (ZSDS).[32,33] The ZSDS is a 20-item self-report that has been used to detect depression and more-general distress; single items are also used to screen for conditions such as fatigue.[34] Staff members typically administer the screen while patients are in the waiting room. Scores are analyzed immediately after completion so that medical oncologists can be briefed on any pertinent issues. In addition, patients scoring in the moderate range or higher are identified for further follow-up and more-extensive interviews and assessment by the staff psychiatrist or psychologist. Also, patients who trigger single items of interest, such as fatigue, are interviewed and monitored for possible inclusion in a number of symptom-control research trials.

### References

Nicholas DR, Veach TA: The psychosocial assessment of the adult cancer patient. Prof Psychol 31 (2): 206-15, 2000.
Zabora JR: Screening procedures for psychosocial distress. In: Holland JC, Breitbart W, Jacobsen PB, et al., eds.: Psycho-oncology. Oxford University Press, 1998, pp 653-61.
Zabora JR, Smith-Wilson R, Fetting JH, et al.: An efficient method for psychosocial screening of cancer patients. Psychosomatics 31 (2): 192-6, 1990 Spring.2330401 90232082
Hoffman BM, Zevon MA, D'Arrigo MC, et al.: Screening for distress in cancer patients: the NCCN rapid-screening measure. Psychooncology 13 (11): 792-9, 2004.15386639
Jacobsen PB, Donovan KA, Trask PC, et al.: Screening for psychologic distress in ambulatory cancer patients. Cancer 103 (7): 1494-502, 2005.15726544
Akizuki N, Akechi T, Nakanishi T, et al.: Development of a brief screening interview for adjustment disorders and major depression in patients with cancer. Cancer 97 (10): 2605-13, 2003.12733160 22617776
Dabrowski M, Boucher K, Ward JH, et al.: Clinical experience with the NCCN distress thermometer in breast cancer patients. J Natl Compr Canc Netw 5 (1): 104-11, 2007.17239330
Keir ST, Calhoun-Eagan RD, Swartz JJ, et al.: Screening for distress in patients with brain cancer using the NCCN's rapid screening measure. Psychooncology 17 (6): 621-5, 2008.17973236
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Distress Management. Version 1.2025. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2024. Available online with free registration (https://www.nccn.org/professionals/physician_gls/pdf/distress.pdf). Last accessed Feb. 26, 2025.
Ma X, Zhang J, Zhong W, et al.: The diagnostic role of a short screening tool--the distress thermometer: a meta-analysis. Support Care Cancer 22 (7): 1741-55, 2014.24510195
Riba MB, Donovan KA, Andersen B, et al.: Distress Management, Version 3.2019, NCCN Clinical Practice Guidelines in Oncology. J Natl Compr Canc Netw 17 (10): 1229-1249, 2019.31590149
Patterson P, D'Agostino NM, McDonald FEJ, et al.: Screening for distress and needs: Findings from a multinational validation of the Adolescent and Young Adult Psycho-Oncology Screening Tool with newly diagnosed patients. Psychooncology 30 (11): 1849-1858, 2021.34160847
Derogatis LR, Melisaratos N: The Brief Symptom Inventory: an introductory report. Psychol Med 13 (3): 595-605, 1983.6622612 84016443
Derogatis LR: BSI-18: Brief Symptom Inventory 18. Administration, Scoring and Procedures Manual. NCS Pearson, 2001.
Hegel MT, Collins ED, Kearing S, et al.: Sensitivity and specificity of the Distress Thermometer for depression in newly diagnosed breast cancer patients. Psychooncology 17 (6): 556-60, 2008.17957755
Webster K, Cella D, Yost K: The Functional Assessment of Chronic Illness Therapy (FACIT) Measurement System: properties, applications, and interpretation. Health Qual Life Outcomes 1: 79, 2003.14678568
Kugaya A, Akechi T, Okuyama T, et al.: Prevalence, predictive factors, and screening for psychologic distress in patients with newly diagnosed head and neck cancer. Cancer 88 (12): 2817-23, 2000.10870066 20329865
Zigmond AS, Snaith RP: The hospital anxiety and depression scale. Acta Psychiatr Scand 67 (6): 361-70, 1983.6880820 83279108
Love AW, Kissane DW, Bloch S, et al.: Diagnostic efficiency of the Hospital Anxiety and Depression Scale in women with early stage breast cancer. Aust N Z J Psychiatry 36 (2): 246-50, 2002.11982548 21978741
Jensen RE, Potosky AL, Moinpour CM, et al.: United States Population-Based Estimates of Patient-Reported Outcomes Measurement Information System Symptom and Functional Status Reference Values for Individuals With Cancer. J Clin Oncol 35 (17): 1913-1920, 2017.28426375
McNair DM, Lorr M, Droppleman LF: Profile of Mood States Manual. Educational and Industrial Testing Service, 1992.
Dugan W, McDonald MV, Passik SD, et al.: Use of the Zung Self-Rating Depression Scale in cancer patients: feasibility as a screening tool. Psychooncology 7 (6): 483-93, 1998 Nov-Dec.9885089 99100827
Roth AJ, Kornblith AB, Batel-Copel L, et al.: Rapid screening for psychologic distress in men with prostate carcinoma: a pilot study. Cancer 82 (10): 1904-8, 1998.9587123 98246550
Carroll BT, Kathol RG, Noyes R, et al.: Screening for depression and anxiety in cancer patients using the Hospital Anxiety and Depression Scale. Gen Hosp Psychiatry 15 (2): 69-74, 1993.8472942 93231513
Ibbotson T, Maguire P, Selby P, et al.: Screening for anxiety and depression in cancer patients: the effects of disease and treatment. Eur J Cancer 30A (1): 37-40, 1994.8142161 94190657
Razavi D, Delvaux N, Farvacques C, et al.: Screening for adjustment disorders and major depressive disorders in cancer in-patients. Br J Psychiatry 156: 79-83, 1990.2297623 90123787
Kissane DW, McKenzie M, McKenzie DP, et al.: Psychosocial morbidity associated with patterns of family functioning in palliative care: baseline data from the Family Focused Grief Therapy controlled trial. Palliat Med 17 (6): 527-37, 2003.14526887
Maunsell E, Brisson J, Deschênes L, et al.: Randomized trial of a psychologic distress screening program after breast cancer: effects on quality of life. J Clin Oncol 14 (10): 2747-55, 1996.8874336 97028322
McLachlan SA, Allenby A, Matthews J, et al.: Randomized trial of coordinated psychosocial interventions based on patient self-assessments versus standard care to improve the psychosocial functioning of patients with cancer. J Clin Oncol 19 (21): 4117-25, 2001.11689579 21548125
Carlson LE, Groff SL, Maciejewski O, et al.: Screening for distress in lung and breast cancer outpatients: a randomized controlled trial. J Clin Oncol 28 (33): 4884-91, 2010.20940193
Carlson LE, Waller A, Groff SL, et al.: Online screening for distress, the 6th vital sign, in newly diagnosed oncology outpatients: randomised controlled trial of computerised vs personalised triage. Br J Cancer 107 (4): 617-25, 2012.22828610
Zung WW: Depression in the normal aged. Psychosomatics 8 (5): 287-92, 1967 Sep-Oct.6061160 68054228
Zung WW: Factors influencing the self-rating depression scale. Arch Gen Psychiatry 16 (5): 543-7, 1967.4381571 67137296
Kirsh KL, Passik S, Holtsclaw E, et al.: I get tired for no reason: a single item screening for cancer-related fatigue. J Pain Symptom Manage 22 (5): 931-7, 2001.11728796 21585986

## Normal Adjustment

Adjustment, well-being, or psychosocial adaptation to cancer has been defined [1-3] as an ongoing process in which the individual patient tries to do the following:

- Manage emotional distress.
- Solve specific cancer-related problems.
- Gain mastery of or control over cancer-related life events.

Adjustment to cancer is not a unitary, single event but rather a series of ongoing coping responses to the many tasks associated with living with cancer. Patients face many challenges that vary with the clinical course of the disease. Common periods of crisis and significant challenges include:

- Initial diagnosis.
- Active treatment (e.g., surgery, radiation, and chemotherapy).
- Posttreatment and remission.
- Recurrence.
- Terminating curative treatment.
- Long-term survivorship.

Each of these events may include challenges such as the following:

- Certain coping tasks.
- Particular existential questions.
- Common emotional responses.
- Specific problems.

Normal or successful adjustment occurs in patients who are able to minimize disruptions to life roles, regulate emotional distress, and remain actively involved in aspects of life that continue to hold meaning and importance.

Coping refers to the specific thoughts and behaviors that patients use to adjust to cancer.[2] One cognitive theory of coping [4] proposes that in response to significant life events, a person asks two important questions:

- Is this event personally significant to me?
- What resources do I have to manage/control this event?

A low level of distress is the result of a perception that either the demands of a situation are low or the individual’s resources are substantial.[5] Therefore, to lower distress levels, either the perceived demands of a situation should be lowered, or the perceived resources should be increased.

Coping strategies refer to specific cognitive and behavioral activities that use situation-specific coping efforts to adjust, such as readjusting one’s daily routine or work schedule to adjust to the side effects of cancer treatment. Among many successful coping strategies, three broad categories have been noted:[2,6,7]

- Problem-focused strategies help patients manage specific problems by directly trying to alter problematic situations. Some of these approaches may be adaptive (e.g., seeking information about treatment option survival rates), but some may not (e.g., paying large amounts of money for unproven treatment options).[8]
- Emotion-focused strategies allow patients to regulate their degree of emotional distress with either emotion-engaging behaviors (e.g., seeking social support) or emotion-avoidant behaviors, as the person attempts to escape reminders of the cause of distress (e.g., not seeking treatment after a diagnosis, use of alcohol or other drugs).
- Meaning-focused strategies help patients understand why an event has happened and what impact cancer will have on their lives. In general, people who adjust well typically remain committed to and actively engaged in coping with cancer and continue to find meaning and importance in their lives. People who do not adjust well often withdraw, become disengaged, and feel hopeless. Assessing the degree of engagement versus giving up may be a way to distinguish between successful and unsuccessful adjustment.

Patients may switch among these strategies, even from adaptive to maladaptive, depending on their current functioning levels.

Coping style refers to the most-common, more-frequent, and longer-term use of a set of coping strategies that an individual tends to use across a variety of life situations (e.g., use of alcohol, seeking social support, use of religious/spirituality resources). Coping style is often closely related to overall disposition and personality (e.g., optimism, pessimism, introversion, extroversion).[9]

One criticism of the literature focuses on the assumption that coping with cancer is a unitary, single event. In reality, coping with cancer involves coping styles and strategies that may vary according to the nature of the stressors being encountered. For example, in a study of 52 adults receiving palliative care for cancer,[10] patients participated in a semistructured interview during which they were asked how they coped with their most significant stressors. Results showed that most participants used a range of coping strategies. However, there were interactions between stressor domains (existential, psychosocial, physical) and coping categories (problem focused, emotion focused, emotion avoidant). Problem-focused strategies were used less frequently for the existential stressors, while emotion-focused strategies were used less frequently for the physical stressors.[10]

### General Factors Influencing Adjustment

Although there are common factors in normal adjustment to the varying stressors of cancer, there are also many individual differences. It is difficult to predict how a given patient will cope with cancer, so it is important to recognize factors that influence adjustment to cancer. One study of women with stage II or stage III breast cancer [11] reported that higher levels of stress (including both cancer and noncancer stressors) measured at the time of diagnosis and again after surgery predicted lower physical and psychological quality of life.

Another study evaluated women with stage 0 to stage III breast cancer (N = 89) at three time points: during treatment, 3 weeks after the end of treatment, and 3 months posttreatment. Most survivors showed good adjustment on general distress indices. The factors predicting sustained distress included younger age, history of depression or anxiety, and more-extensive treatment.[12]

Psychosocial adjustment/adaptation is influenced by three broad categories of factors: cancer derived, patient derived, and society derived.[3]

The personality traits of optimism and pessimism might play a critical role in the psychological well-being of patients with cancer. A German study investigated the impact of optimism and pessimism on psychological well-being in 161 patients who were newly diagnosed with heterogeneous cancers.[13] Patients were assessed for optimism/pessimism and positive/negative emotions before their first chemotherapy session and at 9 months’ follow-up. Before the start of chemotherapy, psychological well-being was associated with higher levels of optimism and lower levels of pessimism. At the 9-month follow-up, pessimism predicted negative changes in psychological well-being as well as heightened experiences of chemotherapy-related side effects.

The availability of social support has been found to be related to mortality from breast cancer. In a longitudinal study of 2,835 female nurses with breast cancer, those who reported no close contacts (e.g., relatives, friends, or living children) before their diagnosis had a twofold increased risk of mortality from breast cancer, compared with those who had more social contacts (e.g., ten or more close relatives).[14]

### Situation-Specific Influences on Adjustment

#### Hearing the diagnosis

The process of adjusting to cancer can begin even before a diagnosis. Patients may respond with normal levels of fear, worry, and concern when they have unexplained symptoms or when they realize that they are undergoing testing to determine the presence of cancer. When they hear the diagnosis, their fears become realized, generating a psychological and existential plight (crisis).[15] Because of the effect that heightened distress (secondary to adjustment to cancer) can have on attention and cognitive processing, communication with patients about their cancer diagnosis may be impaired.[16] During this time, it can be helpful to provide additional professional support to address problems such as fatigue, insomnia, and depressed mood, which are associated with adjustment to cancer and may also affect patient-provider interactions and quality of life.[17] For more information, see Communication in Cancer Care.

#### Active treatment

Longer-term adaptation takes place over an extended time, during which longer-lasting and permanent adjustment to cancer occurs. During this period of weeks or months, patients use a variety of coping strategies and styles. This combination of longer-term coping styles and short-term coping strategies usually serves patients well in their efforts to adjust to cancer.[18] Individual differences result in varied coping styles and strategies, both adaptive and maladaptive.[19] In terms of clinical characteristics, patients who have more comorbidities, lower functional status, or a self-reported diagnosis of depression or back pain may be more likely to experience clinically meaningful anxiety during chemotherapy treatment than patients who do not have those clinical characteristics.[20][Level of evidence: II]

#### Posttreatment remission

The completion of active treatment can cause ambivalence for cancer patients and their families. The completion of active treatment can be a time of heightened distress,[21] with a renewed sense of vulnerability that comes with the cessation of active medical efforts to fight the disease, decreased monitoring, and loss of frequent contact/support from the medical team.[22]

Other adjustment issues include living with uncertainty, returning to previous life roles, and hypervigilance to health concerns, especially if the cognitive or physical effects of cancer or treatment linger.[23]

Normal anxiety and worry often intensify as follow-up appointments approach. Normal anxiety comes from concerns about recurrence and the related emotional consequences (e.g., re-entry into the patient role and renewed feelings of loss of control). Many patients find waiting for test results to be a particularly distressing experience.

For most individuals, this normal escalation of distress after treatment ends appears to be temporary and resolves within a few weeks. In an empirical study of posttreatment adjustment, 94 women with stage 0, I, II, or III breast cancer who were completing radiation therapy were assessed on measures of depression, anxiety, and quality of life on the last day of treatment and at 2 weeks, 4 to 6 weeks, 3 months, and 6 months posttreatment. Results found elevated symptoms of depression, low-level anxiety, and diminished quality of life on the last day of treatment. However, by 2 weeks later, symptoms of depression and quality of life improved significantly.[24]

#### Recurrence

Recurrence of cancer after treatment can escalate stress for patients and may prompt providers to screen for psychosocial distress. In a study of women with recurrent breast cancer, significant impairments in physical, functional, and emotional well-being were found within 1 month after recurrence. However, the following factors had positive effects on quality of life:[25]

- A patient’s self-efficacy (confidence in the ability to manage the demands of illness).
- Social support.
- Family hardiness (family’s internal strength and ability to manage hardship and change).

Conversely, the following factors were associated with a lower quality of life:[25]

- More distress about physical symptoms.
- Additional life concerns.
- A sense of hopelessness.
- A negative perception of illness or caregiving.

The patient who successfully adjusts to the crisis of recurrence often shifts expectations and maintains hope through a variety of meaningful life activities. For example, a patient who believes that pain and suffering can be controlled will have hope for future quality of life. Religion and spirituality also play an important role in helping many patients maintain mental and physical quality of life. Providers may wish to screen for spiritual health at this stage of cancer to make appropriate referrals.[26,27] For more information, see Spirituality in Cancer Care.

#### Advanced cancer and noncurative treatment

Patients with advanced cancer may experience psychological distress, physical symptoms, and the existential crisis of death, all of which may combine to result in significant suffering.[28] A meta-analysis examined mental health variables in 24 studies of mood disorders in palliative care settings in seven countries with more than 4,000 patients.[29] Diagnoses in all of the studies were made via criteria of the Diagnostic and Statistical Manual of Mental Disorders (DSM) or the International Statistical Classification of Diseases and Related Health Problems (ICD). This meta-analysis found that while mood disorders and anxiety were prevalent in palliative care settings—and should certainly be screened for and treated in any setting—it is also normal for patients to have no mental health concerns during palliative care treatment. The meta-analysis found major mood disorder or depression in 24.6% of the palliative care population and some form of anxiety disorder in 9.8% of patients. Milder mental health concerns, such as adjustment disorder (with anxiety and/or depressive features), were found in 24.7% of patients.[29] For more information, see Depression and Cancer-Related Post-Traumatic Stress.

How patients with advanced cancer perceive their prognosis may be one reason for psychosocial distress. In a cross-sectional, descriptive study of 559 patients with incurable cancer, patients completed the Prognosis and Treatment Perception Questionnaire and the Hospital Anxiety and Depression Scale (HADS).[30][Level of evidence: II] The authors defined clinically significant symptoms of depression or anxiety as having a score of more than 7 on the HADS depression or anxiety subscale. Findings included the following:

- About 62% of participants reported that both their and their oncologist's treatment goals were noncurative. Of these participants, 27% reported depression and 32% reported anxiety.
- Nineteen percent of participants reported that both their and their oncologist's treatment goals were curative. In this group, 19% reported depression and 23% reported anxiety.
- Fourteen percent of participants reported that their goal was curative treatment and their oncologist's goal was noncurative care. In this group, 27% reported depression and 37% reported anxiety.
- Five percent of participants reported that their goal was noncurative care and their oncologist's goal was curative treatment. In this group, 21% reported depression and 39% reported anxiety.

The findings of this study suggest that patients whose treatment goal does not match that of their oncologist may be more likely to experience anxiety. An important limitation of this study is that the authors did not assess clinicians’ treatment goals or patients’ treatment status. In addition, the study was conducted at a single cancer center with a predominantly White, non-Hispanic sample. Nevertheless, the findings highlight the importance of patient-centered communication and psychosocial support, particularly when discussing goals of care. For more information, see Communication in Cancer Care.

#### Long-term survivorship

The adjustment from posttreatment to long-term survivorship is gradual and extends over many years. However, despite various cancer diagnoses and treatments, most patients adjust well, with some even reporting benefits of a cancer diagnosis (e.g., greater appreciation of life, reprioritizing of life values, strengthening of spiritual or religious beliefs).[31-34] Patients who have poorer adjustment tend to have the following:

- Greater medical problems.
- Fewer social supports.
- Poorer premorbid psychological adjustment.
- Fewer economic resources.

In general, studies of cancer survivors and healthy comparison groups have found no significant differences in measures of psychological distress, marital and sexual adjustment, social functioning, and overall psychosocial functioning.

However, many cancer survivors experience some common areas of distress that are subthreshold or not severe enough to meet diagnostic criteria, including:[35]

- Anxiety about recurrence.
- An increased sense of vulnerability.
- Lowered sense of control.
- Conditioned reminders of chemotherapy (smells, sights) that produce anxiety and nausea.
- Post-traumatic stress–like symptoms (such as persistent, intrusive thoughts or recurrent imagery associated with cancer).
- Fatigue.
- Concerns about body image and sexuality.

An assessment of more than 6,000 cancer survivors found that more than 50% reported fear of recurrence, mostly with low intensity. Survivors at risk of high levels of fear of recurrence included women, individuals younger than 59 years, those at 5 to 7 years postdiagnosis, socially isolated individuals, those with lower education levels, and individuals with a history of metastases or recurrence.[36]

In one of the few prospective longitudinal studies of cancer survivors, 752 survivors from three U.S. states were asked about a variety of psychosocial problems. About 1 year after diagnosis, 68% felt fearful that their illness would return, approximately 60% were concerned about relapse, and 58% had fears about the future. In addition, approximately two out of three survivors were concerned about a physical health problem, such as fatigue and loss of strength. Approximately 48% reported sleep difficulties, and 41% reported concerns with sexual dysfunction. Survivors who were younger (aged 18–54 years), female, non-White, unmarried, or who had lower incomes reported more problems. In comparisons of four common cancers, the most concerns regarding problems in living were reported by those with lung cancer, followed by survivors of breast, colorectal, and prostate cancers.[37]

Referral to psycho-oncology services may benefit patients during survivorship. A prospective observational study of 243 adults referred for psycho-oncology services assessed the impact of one or two visits for pharmacotherapy and/or psychotherapy on depression and distress.[38][Level of evidence: II] Patients were seen an average of 2.5 years after diagnosis. Depression was measured with the Patient Health Questionnaire (PHQ-9), and distress was measured with the Distress Thermometer. Participants' depression and distress scores were significantly lower at the second visit than at baseline. The differences in scores were clinically meaningful and did not differ by clinician type (prescriber or nonprescriber).

Multifocal interventions may help cancer survivors address multiple mental and physical health issues simultaneously. In a multicenter trial of 222 posttreatment breast cancer survivors, researchers implemented the Better Exercise Adherence after Treatment for Cancer (BEAT Cancer) intervention. In this study, over 3 months, patients engaged in 12 supervised exercise sessions that were tapered to an unsupervised at-home exercise program (though logged with a heart rate monitor), individual counseling sessions, and group counseling. These sessions encouraged regular exercise, promoted self-monitoring, and engaged patients in cognitive reframing of current physical limitations, which had a significant positive impact on body image, mood, cardiovascular fitness, and general quality of life.[39]

A large longitudinal study of women breast cancer survivors older than 65 years (N = 660) investigated factors associated with changes in emotional well-being. Overall findings suggested that the 5-year survivorship experience for most women was relatively stable, with few changes in emotional well-being. However, women who had fewer than 12 years of formal education and women who perceived themselves as never being cured were more likely to experience declines in emotional well-being. In contrast, those who had better physical functioning, good emotional support, and the perception of positive physician-patient communication were less likely to have poor emotional health.[40]

### References

Brennan J: Adjustment to cancer - coping or personal transition? Psychooncology 10 (1): 1-18, 2001 Jan-Feb.11180573 21110805
Folkman S, Greer S: Promoting psychological well-being in the face of serious illness: when theory, research and practice inform each other. Psychooncology 9 (1): 11-9, 2000 Jan-Feb.10668055 20134756
Nicholas DR, Veach TA: The psychosocial assessment of the adult cancer patient. Prof Psychol 31 (2): 206-15, 2000.
Lazarus RS, Folkman S: Stress, Appraisal, and Coping. Springer Publishing Co, 1984.
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Pearlin LI, Schooler C: The structure of coping. J Health Soc Behav 19 (1): 2-21, 1978.649936 78172142
Ahmad MM, Musil CM, Zauszniewski JA, et al.: Prostate cancer: appraisal, coping, and health status. J Gerontol Nurs 31 (10): 34-43, 2005.16262089
Ransom S, Jacobsen PB, Schmidt JE, et al.: Relationship of problem-focused coping strategies to changes in quality of life following treatment for early stage breast cancer. J Pain Symptom Manage 30 (3): 243-53, 2005.16183008
Schou I, Ekeberg Ø, Ruland CM, et al.: Pessimism as a predictor of emotional morbidity one year following breast cancer surgery. Psychooncology 13 (5): 309-20, 2004.15133772
De Faye BJ, Wilson KG, Chater S, et al.: Stress and coping with advanced cancer. Palliat Support Care 4 (3): 239-49, 2006.17066965
Golden-Kreutz DM, Thornton LM, Wells-Di Gregorio S, et al.: Traumatic stress, perceived global stress, and life events: prospectively predicting quality of life in breast cancer patients. Health Psychol 24 (3): 288-96, 2005.15898865
Costanzo ES, Lutgendorf SK, Mattes ML, et al.: Adjusting to life after treatment: distress and quality of life following treatment for breast cancer. Br J Cancer 97 (12): 1625-31, 2007.18000503
Pinquart M, Fröhlich C, Silbereisen RK: Optimism, pessimism, and change of psychological well-being in cancer patients. Psychol Health Med 12 (4): 421-32, 2007.17620206
Kroenke CH, Kubzansky LD, Schernhammer ES, et al.: Social networks, social support, and survival after breast cancer diagnosis. J Clin Oncol 24 (7): 1105-11, 2006.16505430
Weisman AD, Worden JW: The existential plight in cancer: significance of the first 100 days. Int J Psychiatry Med 7 (1): 1-15, 1976-77.1052080 77005419
Bishop SJ: Trait anxiety and impoverished prefrontal control of attention. Nat Neurosci 12 (1): 92-8, 2009.19079249
Visser MR, van Lanschot JJ, van der Velden J, et al.: Quality of life in newly diagnosed cancer patients waiting for surgery is seriously impaired. J Surg Oncol 93 (7): 571-7, 2006.16705725
Paek MS, Ip EH, Levine B, et al.: Longitudinal Reciprocal Relationships Between Quality of Life and Coping Strategies Among Women with Breast Cancer. Ann Behav Med 50 (5): 775-783, 2016.27272631
Bryant AL, Smith SK, Zimmer C, et al.: An exploratory path model of the relationships between positive and negative adaptation to cancer on quality of life among non-Hodgkin lymphoma survivors. J Psychosoc Oncol 33 (3): 310-31, 2015.25751114
Oppegaard K, Harris CS, Shin J, et al.: Anxiety profiles are associated with stress, resilience and symptom severity in outpatients receiving chemotherapy. Support Care Cancer 29 (12): 7825-7836, 2021.34176016
Henselmans I, Helgeson VS, Seltman H, et al.: Identification and prediction of distress trajectories in the first year after a breast cancer diagnosis. Health Psychol 29 (2): 160-8, 2010.20230089
Sherman AC, Simonton S: Family therapy for cancer patients: clinical issues and interventions. The Family Journal: Counseling and Therapy for Couples and Families 7 (1): 39-50, 1999.
Helgeson VS, Snyder P, Seltman H: Psychological and physical adjustment to breast cancer over 4 years: identifying distinct trajectories of change. Health Psychol 23 (1): 3-15, 2004.14756598
Deshields T, Tibbs T, Fan MY, et al.: Ending treatment: the course of emotional adjustment and quality of life among breast cancer survivors immediately following radiation therapy. Support Care Cancer 13 (12): 1018-26, 2005.15800768
Northouse LL, Mood D, Kershaw T, et al.: Quality of life of women with recurrent breast cancer and their family members. J Clin Oncol 20 (19): 4050-64, 2002.12351603 22239102
Kristeller JL, Rhodes M, Cripe LD, et al.: Oncologist Assisted Spiritual Intervention Study (OASIS): patient acceptability and initial evidence of effects. Int J Psychiatry Med 35 (4): 329-47, 2005.16673834
Ray A, Block SD, Friedlander RJ, et al.: Peaceful awareness in patients with advanced cancer. J Palliat Med 9 (6): 1359-68, 2006.17187544
Cherny NI, Coyle N, Foley KM: Suffering in the advanced cancer patient: a definition and taxonomy. J Palliat Care 10 (2): 57-70, 1994 Summer.8089819 94376261
Mitchell AJ, Chan M, Bhatti H, et al.: Prevalence of depression, anxiety, and adjustment disorder in oncological, haematological, and palliative-care settings: a meta-analysis of 94 interview-based studies. Lancet Oncol 12 (2): 160-74, 2011.21251875
El-Jawahri A, Forst D, Fenech A, et al.: Relationship Between Perceptions of Treatment Goals and Psychological Distress in Patients With Advanced Cancer. J Natl Compr Canc Netw 18 (7): 849-855, 2020.32634779
Polinsky ML: Functional status of long-term breast cancer survivors: demonstrating chronicity. Health Soc Work 19 (3): 165-73, 1994.7959398 95047899
Curbow B, Somerfield MR, Baker F, et al.: Personal changes, dispositional optimism, and psychological adjustment to bone marrow transplantation. J Behav Med 16 (5): 423-43, 1993.8254649 94076324
Belec RH: Quality of life: perceptions of long-term survivors of bone marrow transplantation. Oncol Nurs Forum 19 (1): 31-7, 1992 Jan-Feb.1538986 92168827
Tartaro J, Roberts J, Nosarti C, et al.: Who benefits?: distress, adjustment and benefit-finding among breast cancer survivors. J Psychosoc Oncol 23 (2-3): 45-64, 2005.16492651
Smith MY, Redd WH, Peyser C, et al.: Post-traumatic stress disorder in cancer: a review. Psychooncology 8 (6): 521-37, 1999 Nov-Dec.10607985 20076768
Koch-Gallenkamp L, Bertram H, Eberle A, et al.: Fear of recurrence in long-term cancer survivors-Do cancer type, sex, time since diagnosis, and social support matter? Health Psychol 35 (12): 1329-1333, 2016.27175578
Baker F, Denniston M, Smith T, et al.: Adult cancer survivors: how are they faring? Cancer 104 (11 Suppl): 2565-76, 2005.16258929
Molinaro J, Banerjee A, Lyndon S, et al.: Reducing distress and depression in cancer patients during survivorship. Psychooncology 30 (6): 962-969, 2021.33797112
Rogers LQ, Courneya KS, Anton PM, et al.: Effects of a multicomponent physical activity behavior change intervention on fatigue, anxiety, and depressive symptomatology in breast cancer survivors: randomized trial. Psychooncology 26 (11): 1901-1906, 2017.27530961
Clough-Gorr KM, Ganz PA, Silliman RA: Older breast cancer survivors: factors associated with change in emotional well-being. J Clin Oncol 25 (11): 1334-40, 2007.17312327

## Psychosocial Distress

Distress in cancer has been defined as “a multifactorial unpleasant experience of a psychological (i.e., cognitive, behavioral, emotional), social, spiritual, and/or physical nature that may interfere with one's ability to cope effectively with cancer, its physical symptoms, and its treatment. Distress extends along a continuum, ranging from common normal feelings of vulnerability, sadness, and fears to problems that can become disabling, such as depression, anxiety, panic, social isolation, and existential and spiritual crisis.”[1] Standards of care have been developed for the management of psychosocial distress.[2]

The broad goal of the National Comprehensive Cancer Network (NCCN) is to establish standards of care so that all patients experiencing psychosocial distress will be accurately and routinely identified, recognized, and treated promptly at all stages of disease.[1] NCCN guidelines include recommendations for the following:

- Screening.
- Triage.
- Initial evaluation.

Also included are referral and treatment guidelines for each participating profession, including:

- Mental health (psychology and psychiatry).
- Social work.
- Palliative care.
- Pastoral care.

Distress and the need for screening are most likely to occur during the following periods:

- Shortly after diagnosis.
- At the start of treatment (surgery, radiation, and chemotherapy).
- At the conclusion of a long course of treatment.
- Periodically during posttreatment and remission.
- At the time of recurrence.
- With transition to palliative care.

For more information, see the Overview section.

### Psychosocial Interventions for Distress

An extensive body of literature supports the efficacy of psychosocial interventions for adult patients with cancer.[3][Level of evidence: IV];[4-6][Level of evidence: I] Reviews have concluded that, in general, psychosocial interventions for cancer patients have shown positive benefits.

Psychosocial interventions are generally defined as nonpharmacological interventions that include a variety of psychological and educational components, including the following:

- Relaxation training.
- Cognitive and behavioral coping strategies.
- Cancer education/information sessions.
- Existential therapy.
- Group social support.

Interventions have included various combinations of these components, have varied in length (from a single session to multiple weekly sessions), and have been administered in both individual and group formats. The most common patient population has been U.S. White women of middle to higher socioeconomic status who have breast cancer. However, some studies included mixed cancer diagnoses, and some studies were from European countries.[3] Outcome measures have included the following:[3,4]

- Emotional adjustment (e.g., depression, anxiety).
- Functional impairment (e.g., return to work, social roles).
- Disease-related symptoms (e.g., nausea/vomiting, fatigue, pain).
- Health behaviors (e.g., diet, smoking, exercise).
- Immune system functioning.

A biobehavioral model [3] hypothesizing psychological, behavioral, and biological pathways from cancer stressors to disease outcome has guided much of this research. The most common outcome measured has been emotional adjustment.

Although positive benefits for psychosocial interventions have been found, their clinical significance has been questioned. Reviewers have offered varying conclusions regarding the size of positive effects,[4][Level of evidence: I] ranging from negligible for depression, to small for overall emotional outcomes, to moderate for anxiety.[5][Level of evidence: I]

Effect sizes may be related to the timing of the intervention and patient selection procedures. For many patients, levels of psychosocial distress are highest during the earliest days of their cancer experience and dissipate quickly. If interventions are offered weeks or months after diagnosis and treatment, patients may have less distress than if interventions had been offered earlier, making large effects more difficult to detect.[7][Level of evidence: II]

In one study,[8] 249 breast cancer patient-partner dyads were randomly assigned to one of four groups:

- A control group that received standard disease management.
- A standardized psychoeducation group.
- A group that received telephone counseling.
- A group that received psychoeducation plus telephone counseling.

Patients and partners who received the study interventions had less side-effect distress and severity as well as higher levels of psychological well-being than those who received standard care. In addition, the study results supported the efficacy of low-cost, replicable interventions by video and telephone to achieve these physical and psychological benefits.[8]

Two meta-analyses [4,5][Level of evidence: I] reported the following effect sizes:

- 0.19 for depression [5] and functional adjustment.[4]
- 0.24 for emotional adjustment.[4]
- 0.26 for treatment- or disease-related symptoms.[4]
- 0.28 for global measures of outcome.[4]
- 0.36 for anxiety.[5]

These positive effect sizes indicate that the average patient receiving the intervention is better off than between 57% and 65% of those not receiving the intervention.

In summary, it appears that when psychosocial interventions are offered to patients who are experiencing distress (e.g., anxiety, depression), the efficacy of the intervention is very strong. Thus, the overall positive benefit for psychosocial interventions seems to be greater with those who seem to need it most.[4,5]

#### Randomized trial of group interventions for breast cancer

Randomized clinical trials have tested the efficacy of small-group psychosocial interventions for U.S. women with early-stage breast cancer. These trials varied in total treatment time, from 8 hours [9][Level of evidence: I] to 20 hours [7,10][Level of evidence: II] to 27 hours,[11][Level of evidence: I] and had a variety of intervention components. For more information, see the Group counseling section.

In one study, investigators evaluated an educational intervention consisting of monthly group sessions lasting 2 hours for 4 consecutive months.[9][Level of evidence: I] Participants were 252 women younger than 50 years with early-stage breast cancer. All of them had recently completed nonhormonal adjuvant treatment and were facing the transition from active treatment to posttreatment survivorship. They were randomly assigned to one of three groups:

- A standard medical care group.
- A nutrition education group.
- A psychosocial education group.

The psychosocial and nutrition education groups included information dissemination, discussion, and some activities/exercises. Topics rotated monthly, and participants could join a group at any time (i.e., they were open groups). In general, patient-to-patient interaction was minimal because sessions were more didactic presentations. The psychosocial education group presented topics relevant to younger women with breast cancer, such as the following:

- Talking with children about cancer.
- How to carry on with life after a diagnosis.
- Relationships/intimacy with partners.
- Hormones and cancer.
- Genetic bases of breast cancer.

The nutrition education group included information about choosing fruits, vegetables, and low-fat foods and how to consistently incorporate these foods into daily life. Shopping, low-fat cooking, eating out, and other related topics were presented. Results showed that patients in both intervention groups reported fewer depressive symptoms and better physical functioning than the standard-care group at a 13-month follow-up. This study is an example of a more-targeted intervention designed for a specific patient population (younger women with breast cancer) at a specific time in their treatment course (soon after completion of active treatment).

#### Self-administered stress management training for chemotherapy

In a randomized trial of 411 patients diagnosed with different types of cancers,[12][Level of evidence: I] traditional psychosocial care was compared with professionally administered and self-administered stress management for chemotherapy. The professional stress management consisted of a 60-minute individual educational session that included a review of common sources of chemotherapy-related stress and three specific stress-management techniques:

- Paced abdominal breathing.
- Progressive muscle relaxation with imagery.
- The use of coping self-statements.

The professional provided the patient with an audiotape of the individual session, prescribed daily practice of the three techniques, and met briefly with the patient before the first chemotherapy session.

In the self-administered group, a professional met with each patient for approximately 10 minutes, provided a packet of instructional materials about coping with chemotherapy, and briefly instructed the patient on their use. These materials included the same information provided to the professionally administered group plus the following:

- A 15-minute videotape.
- A 12-page booklet.
- A 35-minute relaxation audiotape.

Patients in this group were instructed to first view the videotape and then review the booklet, following its instructions for further training, practice, and use of the various techniques.

Results of this novel approach found that patients in the self-administered intervention reported significantly better physical functioning, vitality, and mental health and fewer role limitations than either of the other two groups. Patients in the professionally administered group reported no better outcomes than patients in the traditional-care group. Costs of the self-administered group were significantly lower than those of the other two groups.

#### Brief orientation and tour of a medical oncology clinic

A novel intervention tested the effects of a brief (15- to 20-minute) tour of a medical oncology clinic for new patients.[13][Level of evidence: I] The tour included the following:

- An opportunity to see the phlebotomy, nursing, and chemotherapy areas.
- The distribution of written materials about clinic hours and procedures.
- A time to ask questions.

One hundred and fifty consecutively referred patients who had a variety of cancers were randomly assigned to either the clinic orientation intervention or standard care. Intervention patients showed less anxiety, less mood disturbance, and fewer depressive symptoms at a 1-week follow-up. In addition, these patients reported more knowledge of clinic procedures, more confidence in their physicians, and higher levels of satisfaction and hope. This is an example of how even a simple, minimal intervention can have positive benefits.

#### Use of online information

The Comprehensive Health Enhancement Support System (CHESS) [14] is an online resource for cancer patients. It has two components:

1. Didactic material.
2. Narrative information about medical, practical, and psychosocial issues.

This study addressed the relative appeal and value of these two components separately for White and African American women who had been diagnosed with breast cancer (three-fourths of participants had early-stage disease). The average time spent online with either type of resource was slightly longer for African American women (didactic: 19.7 minutes, standard deviation [SD] = 31.10; narrative: 17.16 minutes, SD = 38.19) than for White women (didactic: 18.30 minutes, SD = 28.62; narrative: 15.78 minutes, SD = 36.60) but had substantially more effect.

Before using the resource, African American women were markedly lower in health care participation. After use, they increased health care participation markedly, regardless of the type of resource, and surpassed the level of health care participation by White women, particularly regarding the effect of the didactic services. This result suggests that while use of both the didactic and narrative CHESS resources is valuable for both groups, it is particularly useful for African American women. The narrative resource version appears to differentially have more impact for White women.

### References

National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Distress Management. Version 1.2025. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2024. Available online with free registration (https://www.nccn.org/professionals/physician_gls/pdf/distress.pdf). Last accessed Feb. 26, 2025.
Fashoyin-Aje LA, Martinez KA, Dy SM: New patient-centered care standards from the commission on cancer: opportunities and challenges. J Support Oncol 10 (3): 107-11, 2012 May-Jun.22440532
Andersen BL: Biobehavioral outcomes following psychological interventions for cancer patients. J Consult Clin Psychol 70 (3): 590-610, 2002.12090371
Meyer TJ, Mark MM: Effects of psychosocial interventions with adult cancer patients: a meta-analysis of randomized experiments. Health Psychol 14 (2): 101-8, 1995.7789344 95309215
Sheard T, Maguire P: The effect of psychological interventions on anxiety and depression in cancer patients: results of two meta-analyses. Br J Cancer 80 (11): 1770-80, 1999.10468295
Barsevick AM, Sweeney C, Haney E, et al.: A systematic qualitative analysis of psychoeducational interventions for depression in patients with cancer. Oncol Nurs Forum 29 (1): 73-84; quiz 85-7, 2002 Jan-Feb.11817494
Antoni MH, Lehman JM, Kilbourn KM, et al.: Cognitive-behavioral stress management intervention decreases the prevalence of depression and enhances benefit finding among women under treatment for early-stage breast cancer. Health Psychol 20 (1): 20-32, 2001.11199062
Budin WC, Hoskins CN, Haber J, et al.: Breast cancer: education, counseling, and adjustment among patients and partners: a randomized clinical trial. Nurs Res 57 (3): 199-213, 2008 May-Jun.18496106
Scheier MF, Helgeson VS, Schulz R, et al.: Interventions to enhance physical and psychological functioning among younger women who are ending nonhormonal adjuvant treatment for early-stage breast cancer. J Clin Oncol 23 (19): 4298-311, 2005.15994143
Antoni MH, Wimberly SR, Lechner SC, et al.: Reduction of cancer-specific thought intrusions and anxiety symptoms with a stress management intervention among women undergoing treatment for breast cancer. Am J Psychiatry 163 (10): 1791-7, 2006.17012691
Andersen BL, Farrar WB, Golden-Kreutz DM, et al.: Psychological, behavioral, and immune changes after a psychological intervention: a clinical trial. J Clin Oncol 22 (17): 3570-80, 2004.15337807
Jacobsen PB, Meade CD, Stein KD, et al.: Efficacy and costs of two forms of stress management training for cancer patients undergoing chemotherapy. J Clin Oncol 20 (12): 2851-62, 2002.12065562 22060843
McQuellon RP, Wells M, Hoffman S, et al.: Reducing distress in cancer patients with an orientation program. Psychooncology 7 (3): 207-17, 1998 May-Jun.9638782
Wise M, Han JY, Shaw B, et al.: Effects of using online narrative and didactic information on healthcare participation for breast cancer patients. Patient Educ Couns 70 (3): 348-56, 2008.18201859

## The Adjustment Disorders

The adjustment disorders are a diagnostic category of the fifth edition of the American Psychiatric Association’s Diagnostic and Statistical Manual of Mental Disorders (DSM-5),[1] defined as reactions to an identifiable psychosocial stressor (e.g., cancer diagnosis or transition in care). The reactions occur within 3 months of the onset of the stressor, with a degree of psychopathology that is less severe than diagnosable mental disorders, such as major depressive disorder or generalized anxiety disorder, yet “in excess of what would be expected” or that results “in significant impairment in social or occupational functioning.”

Four of the most common subtypes are:

1. With depressed mood.
2. With anxiety.
3. With anxiety and depressed mood.
4. With mixed disturbance of emotions and conduct (for patients who may be showing behavioral signs of an adjustment disorder, such as missing appointments or new substance abuse).

### Prevalence

Nearly every cancer patient experiences what could be considered an identifiable stressor, whether that is diagnosis, treatment, recurrence, or side effects. The patient’s response to the identifiable stressor determines the presence of an adjustment disorder.

Adjustment disorders are the most commonly diagnosed mental health issue in the oncology setting. A meta-analysis examined 70 studies across 14 countries with more than 10,000 participants in oncology settings, including hematological oncology. The study found an adjustment disorder prevalence rate of approximately 20% among ambulatory cancer patients in active treatment.[2]

Additional reviews focused on North American populations [3] have found adjustment disorders to be the most common mental health issue among cancer patients. In patients with advanced cancer, prevalence ranges from 14% to 34.7%; in terminally ill patients, rates range from 10.6% to 16.3%. These variable prevalence rates are influenced by stage of disease, type of cancer, diagnostic procedures used, and other patient variables. In a study of women with breast cancer undergoing adjuvant chemotherapy, a 36.1% prevalence rate was found.[4]

### Treatment

Although few studies specifically target cancer patients diagnosed exclusively with adjustment disorder, a number of studies have shown the benefits of psychosocial interventions with adult patients with cancer.[5][Level of evidence: I] These interventions have included both individual counseling [6][Level of evidence: I] and group counseling,[7][Level of evidence: IV];[8,9][Level of evidence: I] and have used a variety of theoretical approaches.

#### Group counseling

Investigators tested the efficacy of a cognitive-behavioral stress management intervention.[10] One hundred newly treated women with breast cancer were randomly assigned to either the intervention or a control condition. The psychosocial intervention consisted of ten weekly, 2-hour group sessions during which didactic material was presented, intermixed with a variety of experiential exercises and homework assignments. The overall intervention focused on learning to cope better with daily cancer-related stressors. Topics included:

- Progressive muscle relaxation.
- Cognitive restructuring.
- Interpersonal stressor conflict resolution.
- Social support.

The control condition consisted of a day-long seminar in which participants received a condensed psychoeducational version of the intervention, with significantly less interaction among group members. Among intervention participants, results showed a decrease in depression and an increase in benefit-finding (i.e., reporting that having breast cancer had made positive contributions to their lives) and optimism.

In a larger randomized study (N = 199) conducted by the same research group [11] in women with stage 0 to stage III nonmetastatic breast cancer, a similar intervention produced somewhat greater sustained decreases in cancer-related intrusive thoughts and sustained improvements in anxiety.

Another study examined an 18-week, 1.5-hours-per-week group intervention consisting of psychological strategies designed to do the following:[12]

- Reduce stress.
- Enhance mood.
- Alter health behaviors (diet, exercise, smoking).
- Enhance adherence to cancer treatments.

Outcome measures included:

- Emotional distress.
- Health behaviors.
- Immune responses.

A total of 227 women, all of whom had undergone surgery for regional breast cancer, were randomly assigned to either the intervention group or an assessment-only control group. Compared with the control group, the intervention group showed significantly less anxiety, improved ability to access social support, more healthy-lifestyle behaviors (with specific improvements noted in dietary and smoking behaviors), and an improvement in symptom levels and functional status.[12] Furthermore, biobehavioral improvements were identified in immune responses among the intervention group. Improved responses were consistent with the psychological and behavioral changes. This study is a strong example of how psychosocial interventions can improve in a variety of biobehavioral (psychological, behavioral, immune) variables.

#### Mindfulness-based therapy

A randomized controlled trial of a 6-week mindfulness-based stress reduction intervention, compared with usual care, was conducted with 84 female survivors of breast cancer.[13] All participants were within 18 months of completing surgery, chemotherapy, and/or radiation therapy and were in the transitional period from completion of active treatment to posttreatment survivorship. The intervention consisted of weekly 2-hour group sessions conducted by a psychologist, who followed a standardized protocol to teach participants sitting meditation, body scan, walking meditation, and gentle yoga. All participants received a training manual and four audiotapes to support home practice and were encouraged to practice daily. Participants who practiced more frequently showed greater improvements, but all participants in the intervention group showed improvements in the following:

- Psychological measures (fear of recurrence, recurrence concerns, state-trait anxiety, and depression).
- Quality of life (physical functioning, role limitations, and energy).

In a study examining the efficacy of mindfulness-based stress reduction in breast cancer survivors,[14] 322 participants were randomly assigned to a 6-week program or usual care. The intervention group received weekly 2-hour sessions consisting of meditative techniques, group processes, and the integration of mindfulness into daily activities. Those who practiced mindfulness-based stress reduction showed improvement in the following:

- Psychological symptoms (anxiety, fear of recurrence overall, and fear of recurrence symptoms).
- Physical symptoms (fatigue severity and fatigue interference).

The survivors with the highest baseline stress experienced the greatest benefit.

In an 8-week study of mindfulness-based cognitive therapy for men with advanced prostate cancer,[15] patients were randomly assigned to a weekly group intervention by telephone (n = 94) or to usual care with minimally enhanced patient education (n = 95). The 1.25-hour telephone sessions were manualized and included short meditations. Daily home mindfulness meditation was encouraged. There was no difference between groups in psychological or quality-of-life outcomes, and no influence on the use of mindfulness skills apart from observing. The authors suggested that older male populations may be less receptive and responsive to mindfulness.

#### Hypnosis and relaxation

In one study, 90 women scheduled for excisional breast biopsy were randomly assigned either to a brief session (15 minutes) of hypnosis and guided relaxation delivered by trained clinical psychologists on the day of surgery or to an attention-control empathic listening session of equal length. Presurgery distress was measured using visual analogue scales and the short version of the Profile of Mood States. The hypnosis session markedly decreased anticipatory anxiety and increased relaxation that was measured just before the biopsy was performed, suggesting that hypnosis- and relaxation-naïve patients can benefit from brief treatment before stressful situations.[16][Level of evidence: II]

#### Cognitive-behavioral therapy

Cognitive-behavioral therapy (CBT) is a widely studied approach based on the idea that mental, emotional, and even physical symptoms partly stem from thoughts, feelings, and behaviors, resulting in poor adaptation.[17] Interventions focus directly on a patient’s thoughts, feelings, and behaviors, with the goal of altering specific coping strategies and alleviating emotional distress.

CBT includes a variety of techniques, such as:

- Relaxation training.
- Problem solving.[18][Level of evidence: I]
- Cognitive restructuring.
- Coping self-statements.

Most studies have combined these approaches into a multicomponent treatment strategy designed to alleviate specific symptoms. CBT approaches tend to be relatively short-term, brief interventions, well-suited to the oncology setting.[17,18] One study randomly assigned 382 patients with different types of cancer to one of three groups:[19][Level of evidence: I]

- Usual care.
- Professionally led stress management.
- Self-administered stress management.

The two intervention groups received stress management training that included the following before the start of chemotherapy:

- Abdominal breathing.
- Progressive muscle relaxation training with guided imagery.
- Coping self-statements.

The professionally led intervention group met with a mental health professional who taught them the stress management skills in one 60-minute session. The self-administered group received a packet of training materials that included:

- A 15-minute videotape of instructions.
- A 12-page booklet on coping with chemotherapy.
- A 35-minute audiotape of relaxation training instructions.

Results showed enhanced quality of life over usual care in the self-administered group only. The professionally led group did not show any improvement in quality of life when compared with usual care.

In a randomized clinical trial for the treatment of adjustment disorders, 57 patients with mixed cancer types were randomly assigned to receive either an 8-week, individual, problem-focused CBT intervention or an 8-week, individual, supportive counseling intervention.[20][Level of evidence: I] Results showed that those receiving the problem-focused CBT exhibited a significant change in fighting spirit, coping with cancer, anxiety, and self-defined problems, both at the conclusion of the intervention and at the 4-month follow-up.

Individual therapy that uses CBT techniques to help patients develop problem-solving skills for multiple life stressors has been shown to be useful for patients with cancer.[21][Level of evidence: II] In this study, the psychosocial intervention consisted of ten 1.5-hour weekly psychotherapy sessions (with or without a significant other present) that focused on training to become an effective problem solver. Four rational problem-solving tasks were emphasized, including:

- Formulating the nature of problems.
- Brainstorming alternative solutions.
- Systematically evaluating potential consequences of a solution while deciding on the optimal ones.
- Evaluating the eventual outcome after solution implementation.

Participants in the intervention group showed greater problem-solving skills, less multidimensional distress, and greater quality of life than control-group participants.

A meta-analysis of 45 studies investigating 62 treatment-control comparisons found significant beneficial effects in emotional adjustment for adult cancer patients who participated in psychosocial interventions.[5][Level of evidence: I] Beneficial effect sizes for emotional adjustment ranged from .19 to .28, indicating that the average cancer patient receiving treatment was better off than 56.5% to 59.5% of the patients not receiving treatment. Benefits in emotional adjustment were seen for interventions delivered in both individual formats [6][Level of evidence: I] and group formats [22][Level of evidence: II] at the conclusion of the intervention and at 6- and 12-month follow-up assessments. One novel approach adapted a 6-week group format to a telephone conference-call structure for breast cancer survivors. There were high acceptability and modest treatment effects immediately after the intervention, but not at the 3-month follow-up.[23][Level of evidence: I]

Another study found that a cognitive behavioral intervention to teach problem-solving was effective in promoting better self-management of cancer-related symptoms, especially for patients aged 60 years or younger.[24][Level of evidence: I]

Increasingly, CBT studies for cancer include biobehavioral outcomes. A randomized controlled trial assigned 159 men with prostate cancer to one of three groups: a CBT-based stress management group, a supportive attention group, or a standard care group. Results demonstrated that two individual sessions (60–90 minutes/session) of the CBT-based intervention, administered 1 to 2 weeks before radical prostatectomy, had a positive impact on a number of immune system parameters (higher natural killer cell cytotoxicity and circulating proinflammatory cytokines).[25][Level of evidence: I] Statistically significant differences in immune outcomes were found only in the intervention group but not in the other two groups.

#### Can psychosocial interventions increase survival?

The intriguing question of whether participation in a psychosocial group intervention can result in increased survival has been investigated since 1989. The original study [26] tested a supportive-expressive group therapy format for women with metastatic breast cancer, while another study [27] tested a psychoeducational group intervention for patients with malignant melanoma. In both studies, a survival advantage was found in the intervention group. However, a critique of the first study [28] found that members of the control group had significantly shorter survival times than would have been expected, when compared with data from the National Cancer Institute's Surveillance, Epidemiology, and End Results (SEER) Program. This finding suggests that the survival advantages may have resulted from inadvertent sampling errors.

Attempts to replicate the supportive-expressive group therapy findings were made in Canada,[29] the United States,[30] and Australia.[31] Although all three studies found significant psychological benefits, no study could replicate the survival benefit.

Literature reviews, including three meta-analyses [32-34] and one systematic review,[35] have concluded that previous research failed to find that psychotherapy affects survival. One summary [36] reported on ten additional randomized controlled trials of various psychosocial interventions for patients with different types of cancers (although most were women with breast cancer). All ten studies noted improved psychosocial benefits. However, nine of the studies showed no significant differences in survival, while one [37] found a survival advantage of about 1 year. This one positive trial was able to stratify groups on a number of important variables (e.g., nodal status, estrogen receptor and progesterone receptor status, and menopausal status) and provided data in support of possible mechanisms, such as enhanced immune functioning and patient compliance with stress reduction procedures. In an analysis of results, this study identified the complexity of factors involved in any survival benefit and the possibility that immune system–mediated benefits may contribute to increased survival when other factors are carefully considered.

In summary, the preponderance of evidence indicates that despite evidence of improved quality of life, psychosocial interventions are unlikely to contribute independently to survival time in patients with cancer. Some experts suggest that continued research into this question is no longer warranted.[38]

#### Pharmacotherapy

No studies have specifically targeted patients with cancer who are diagnosed exclusively with adjustment disorder, in which the primary intervention was some form of pharmacotherapy. Given the nature of the adjustment disorders, clinical experience suggests that, if available, an initial trial of short-term counseling or psychotherapy designed to alter or eliminate the identified stressor (and thus alleviate symptoms) should be tried before pharmacotherapy.[39]

However, sometimes the adjustment disorder progresses to a more-severe mental disorder (e.g., major depressive disorder) and warrants consideration of pharmacotherapy. In addition, when the patient does not benefit from short-term psychotherapy, adding an appropriate psychotropic medication for a brief period of time (e.g., 2–3 weeks for antianxiety medications, 12 months for antidepressants) may facilitate the psychotherapy, allowing the patient to better use available coping strategies. The specific pattern of emotional or behavioral symptoms will determine which type of psychotropic medication to consider. For more information, see Depression.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Mitchell AJ, Chan M, Bhatti H, et al.: Prevalence of depression, anxiety, and adjustment disorder in oncological, haematological, and palliative-care settings: a meta-analysis of 94 interview-based studies. Lancet Oncol 12 (2): 160-74, 2011.21251875
Miovic M, Block S: Psychiatric disorders in advanced cancer. Cancer 110 (8): 1665-76, 2007.17847017
Morasso G: Screening adjustment disorders related to mastectomy and its treatment. New Trends in Experimental and Clinical Psychiatry 13 (1): 90-3, 1997.
Meyer TJ, Mark MM: Effects of psychosocial interventions with adult cancer patients: a meta-analysis of randomized experiments. Health Psychol 14 (2): 101-8, 1995.7789344 95309215
Greer S, Moorey S, Baruch JD, et al.: Adjuvant psychological therapy for patients with cancer: a prospective randomised trial. BMJ 304 (6828): 675-80, 1992.1472184 92240127
Telch CF, Telch MJ: Group coping skills instruction and supportive group therapy for cancer patients: a comparison of strategies. J Consult Clin Psychol 54 (6): 802-8, 1986.3794024 87084194
Penedo FJ, Dahn JR, Molton I, et al.: Cognitive-behavioral stress management improves stress-management skills and quality of life in men recovering from treatment of prostate carcinoma. Cancer 100 (1): 192-200, 2004.14692040
Goodwin PJ, Leszcz M, Ennis M, et al.: The effect of group psychosocial support on survival in metastatic breast cancer. N Engl J Med 345 (24): 1719-26, 2001.11742045
Antoni MH, Lehman JM, Kilbourn KM, et al.: Cognitive-behavioral stress management intervention decreases the prevalence of depression and enhances benefit finding among women under treatment for early-stage breast cancer. Health Psychol 20 (1): 20-32, 2001.11199062
Antoni MH, Wimberly SR, Lechner SC, et al.: Reduction of cancer-specific thought intrusions and anxiety symptoms with a stress management intervention among women undergoing treatment for breast cancer. Am J Psychiatry 163 (10): 1791-7, 2006.17012691
Andersen BL, Farrar WB, Golden-Kreutz DM, et al.: Psychological, behavioral, and immune changes after a psychological intervention: a clinical trial. J Clin Oncol 22 (17): 3570-80, 2004.15337807
Lengacher CA, Johnson-Mallard V, Post-White J, et al.: Randomized controlled trial of mindfulness-based stress reduction (MBSR) for survivors of breast cancer. Psychooncology 18 (12): 1261-72, 2009.19235193
Lengacher CA, Reich RR, Paterson CL, et al.: Examination of Broad Symptom Improvement Resulting From Mindfulness-Based Stress Reduction in Breast Cancer Survivors: A Randomized Controlled Trial. J Clin Oncol 34 (24): 2827-34, 2016.27247219
Chambers SK, Occhipinti S, Foley E, et al.: Mindfulness-Based Cognitive Therapy in Advanced Prostate Cancer: A Randomized Controlled Trial. J Clin Oncol 35 (3): 291-297, 2017.27870567
Schnur JB, Bovbjerg DH, David D, et al.: Hypnosis decreases presurgical distress in excisional breast biopsy patients. Anesth Analg 106 (2): 440-4, table of contents, 2008.18227298
Jacobsen PB, Hann DM: Cognitive-behavioral interventions. In: Holland JC, Breitbart W, Jacobsen PB, et al., eds.: Psycho-oncology. Oxford University Press, 1998, pp 717-29.
Allen SM, Shah AC, Nezu AM, et al.: A problem-solving approach to stress reduction among younger women with breast carcinoma: a randomized controlled trial. Cancer 94 (12): 3089-100, 2002.12115339 22109413
Jacobsen PB, Meade CD, Stein KD, et al.: Efficacy and costs of two forms of stress management training for cancer patients undergoing chemotherapy. J Clin Oncol 20 (12): 2851-62, 2002.12065562 22060843
Moorey S, Greer S, Bliss J, et al.: A comparison of adjuvant psychological therapy and supportive counselling in patients with cancer. Psychooncology 7 (3): 218-28, 1998 May-Jun.9638783 98302639
Nezu AM, Nezu CM, Felgoise SH, et al.: Project Genesis: assessing the efficacy of problem-solving therapy for distressed adult cancer patients. J Consult Clin Psychol 71 (6): 1036-48, 2003.14622079
Fawzy FI, Cousins N, Fawzy NW, et al.: A structured psychiatric intervention for cancer patients. I. Changes over time in methods of coping and affective disturbance. Arch Gen Psychiatry 47 (8): 720-5, 1990.2378543 90334494
Heiney SP, McWayne J, Hurley TG, et al.: Efficacy of therapeutic group by telephone for women with breast cancer. Cancer Nurs 26 (6): 439-47, 2003.15022975
Sherwood P, Given BA, Given CW, et al.: A cognitive behavioral intervention for symptom management in patients with advanced cancer. Oncol Nurs Forum 32 (6): 1190-8, 2005.16270114
Cohen L, Parker PA, Vence L, et al.: Presurgical stress management improves postoperative immune function in men with prostate cancer undergoing radical prostatectomy. Psychosom Med 73 (3): 218-25, 2011.21257977
Spiegel D, Bloom JR, Kraemer HC, et al.: Effect of psychosocial treatment on survival of patients with metastatic breast cancer. Lancet 2 (8668): 888-91, 1989.2571815
Fawzy FI, Fawzy NW, Hyun CS, et al.: Malignant melanoma. Effects of an early structured psychiatric intervention, coping, and affective state on recurrence and survival 6 years later. Arch Gen Psychiatry 50 (9): 681-9, 1993.8357293 93363040
Fox BH: A hypothesis about Spiegel et al.'s 1989 paper on Psychosocial intervention and breast cancer survival. Psychooncology 7 (5): 361-70, 1998 Sep-Oct.9809327
Goodwin PJ, Leszcz M, Quirt G, et al.: Lessons learned from enrollment in the BEST study--a multicenter, randomized trial of group psychosocial support in metastatic breast cancer. J Clin Epidemiol 53 (1): 47-55, 2000.10693903
Classen C, Butler LD, Koopman C, et al.: Supportive-expressive group therapy and distress in patients with metastatic breast cancer: a randomized clinical intervention trial. Arch Gen Psychiatry 58 (5): 494-501, 2001.11343530
Kissane DW, Love A, Hatton A, et al.: Effect of cognitive-existential group therapy on survival in early-stage breast cancer. J Clin Oncol 22 (21): 4255-60, 2004.15452189
Newell SA, Sanson-Fisher RW, Savolainen NJ: Systematic review of psychological therapies for cancer patients: overview and recommendations for future research. J Natl Cancer Inst 94 (8): 558-84, 2002.11959890
Chow E, Tsao MN, Harth T: Does psychosocial intervention improve survival in cancer? A meta-analysis. Palliat Med 18 (1): 25-31, 2004.14982204
Smedslund G, Ringdal GI: Meta-analysis of the effects of psychosocial interventions on survival time in cancer patients. J Psychosom Res 57 (2): 123-31; discussion 133-5, 2004.15465065
Edwards AG, Hailey S, Maxwell M: Psychological interventions for women with metastatic breast cancer. Cochrane Database Syst Rev (2): CD004253, 2004.15106244
Kissane DW: Survival following psychotherapy interventions. In: Holland JC, Breitbart WS, Jacobsen PB, et al., eds.: Psycho-oncology. 2nd ed. Oxford University Press, Inc., 2010, pp 479-82.
Andersen BL, Yang HC, Farrar WB, et al.: Psychologic intervention improves survival for breast cancer patients: a randomized clinical trial. Cancer 113 (12): 3450-8, 2008.19016270
Coyne JC, Stefanek M, Palmer SC: Psychotherapy and survival in cancer: the conflict between hope and evidence. Psychol Bull 133 (3): 367-94, 2007.17469983
Strain JJ: Adjustment disorders. In: Holland JC, Breitbart W, Jacobsen PB, et al., eds.: Psycho-oncology. Oxford University Press, 1998, pp 509-17.

## Anxiety Disorders: Description and Etiology

Anxiety occurs to varying degrees in patients with cancer and may increase as the disease progresses or as treatment becomes more aggressive.[1] Investigators have found that 44% of patients with cancer reported some anxiety, and 23% reported significant anxiety.[2,3] A meta-analysis examining 70 studies across 14 countries with more than 10,000 participants found a prevalence rate of anxiety disorders of approximately 10% among ambulatory cancer patients in active treatment.[4]

Anxiety reactions that are more prolonged or intense can no longer be classified as adjustment disorders. These disorders can negatively affect quality of life, can interfere with a patient’s ability to function socially and emotionally, and require intervention.[5] Anxiety disorders may also be secondary to other aspects of the medical condition, such as uncontrolled pain, certain metabolic states, or medication side effects.

Other specific anxiety disorders—such as generalized anxiety, phobia, or panic disorder—are not as common among patients with cancer and usually predate the cancer diagnosis. These disorders deserve further attention to facilitate cancer care. The stress caused by a diagnosis of cancer and its treatment may precipitate a relapse of preexisting anxiety disorders. These disorders can be disabling and can interfere with treatment. They require prompt diagnosis and effective management.[6]

Factors that may increase the likelihood of developing anxiety disorders during cancer treatment include the following:

- History of anxiety disorders.
- Severe pain or other physical symptoms (untreated anxiety disorders can also escalate the pain experience).[7,8]
- Anxiety at the time of diagnosis.[9]
- Functional limitations.
- Lack of social support.[2]
- Advancing disease.
- History of trauma.[1,10]

Some medical conditions and interventions are associated with symptoms that present as anxiety disorders, including:

- Central nervous system metastases.
- Dyspnea associated with lung cancer.
- Treatment with corticosteroids and other medications.

A patient’s experience with cancer or other illnesses may reactivate associations and memories of previous illness and contribute to acute anxiety. Certain demographic factors, such as being female and developing cancer at a young age, are associated with increased anxiety in medical situations.[2,11] Patients who have problems communicating with their families, friends, and physicians are also at higher risk of developing anxiety.[11]

On the other hand, anxiety can lead to overestimation of negative prognosis. A longitudinal study of women with ductal carcinoma in situ (N = 487) found that anxiety, as measured by the Hospital Anxiety and Depression Scale, was the factor most consistently and strongly associated with inaccurate perception of and overestimation of future breast cancer–related risks.[12]

In patients with advanced disease, anxiety is often caused not by the fear of death but by the issues of uncontrolled pain, isolation, abandonment, and dependency.[13] Many of these factors can be managed when adequately assessed and properly treated.

### Anxiety Disorder Caused by Other General Medical Conditions

The following table highlights possible causes of anxiety in patients with cancer.

Table 2. Possible Causes of Anxiety^a^

Medical Problem | Examples
Poorly controlled pain | Insufficient or as-needed pain medications.
Abnormal metabolic states | Hypoxia, pulmonary embolus, sepsis, delirium, hypoglycemia, bleeding, coronary occlusion, or heart failure.
Hormone-secreting tumors | Pheochromocytoma, thyroid adenoma or carcinoma, parathyroid adenoma, corticotropin-producing tumors, and insulinoma.
Anxiety-producing drugs | Corticosteroids, neuroleptics used as antiemetics, thyroxine, bronchodilators, beta-adrenergic stimulants, antihistamines, and benzodiazepines (paradoxical reactions are often seen in older people).
Anxiety-producing conditions | Substance withdrawal (from alcohol, opioids, or sedative-hypnotics).

^a^Adapted from Massie.[14]

Patients in severe pain are anxious and agitated, and anxiety can prompt or worsen pain. To adequately manage pain, the patient’s anxiety must be treated.[15,16]

Acute onset of anxiety may be a precursor of a change in metabolic state or of another impending medical event, such as myocardial infarction, infection, or pneumonia. Sepsis and electrolyte abnormalities can also cause anxiety symptoms. Sudden anxiety with chest pain or respiratory distress may suggest a pulmonary embolism. Patients who are hypoxic can experience anxiety; they may fear that they are suffocating.

Many drugs can precipitate anxiety in people who are ill. For example, corticosteroids can produce motor restlessness, agitation, and mania as well as depression and thoughts of suicide. Bronchodilators and B-adrenergic receptor stimulants used for chronic respiratory conditions can cause anxiety, irritability, and tremulousness. Akathisia, or motor restlessness accompanied by subjective feelings of distress, is a side effect of neuroleptic drugs, which are commonly used for control of emesis. In addition, withdrawal from opioids, benzodiazepines, barbiturates, nicotine, and alcohol can result in anxiety, agitation, and behaviors that may be problematic for patients in active treatment.

Certain tumor sites can produce symptoms that resemble anxiety disorders. Pheochromocytomas and pituitary microadenomas can present as episodes of panic and anxiety.[17] Non–hormone-secreting pancreatic cancers can cause anxiety symptoms. Primary lung tumors and lung metastases can often cause shortness of breath, which can lead to anxiety.

### Primary Anxiety Disorders

Patients with the following symptoms may have recurrence of a preexisting anxiety disorder due to the stress of cancer diagnosis and treatment:

- Intense fear.
- Inability to absorb information.
- Inability to cooperate with medical procedures.

Somatic symptoms include the following:

- Shortness of breath.
- Sweating.
- Lightheadedness.
- Palpitations.

Patients with cancer can present with any of multiple anxiety disorders diagnosed via the criteria of the fifth edition of the Diagnostic and Statistical Manual of Mental Disorders, including:

- Phobias.
- Panic disorder.
- Generalized anxiety disorder.
- Obsessive-compulsive disorder (potentially in the form of obsessiveness about cancer recurrence).
- Health anxiety disorder.
- Post-traumatic stress disorder (if related to cancer diagnosis; see Cancer-Related Post-Traumatic Stress for more information).
- Anxiety disorder that is caused by another medical condition.

Patients with these anxiety disorders are generally distressed about their symptoms and are usually compliant with behavioral and psychopharmacological intervention.[5]

#### Phobias

Phobias are persistent fears or avoidance of a circumscribed object or situation. People with phobias usually experience intense anxiety and avoid potentially frightening situations. Patients with cancer experience phobias in a number of ways, such as fear of witnessing blood or tissue injury (also known as needle phobia) or claustrophobia (for example, during a magnetic resonance imaging scan). Phobias can complicate medical procedures and can result in the refusal of necessary medical intervention or tests.[5] Phobias generally respond well to exposure therapy and cognitive behavioral therapy (CBT).

#### Panic disorder

In panic disorder, intense, rapid-onset anxiety is the predominant symptom, virtually always accompanied by severe somatic symptoms that may include the following:

- Shortness of breath.
- Dizziness.
- Palpitations.
- Nausea.
- Fears of going crazy or that a heart attack is occurring.

Panic disorder is characterized by discrete panic attacks that seem to happen suddenly, often without a specific trigger, and become intense quickly. Attacks are self-limiting and generally last for 10 to 20 minutes, although the psychological discomfort and fear of recurrence may last longer. Patients with panic attacks often present with symptoms that can be difficult to differentiate from other medical disorders, although a known history of panic disorder can help clarify the diagnosis. Panic disorder in patients with cancer is most often managed with benzodiazepines and antidepressant medications [5] but also responds well to CBT.

#### Generalized anxiety disorder

Generalized anxiety disorder is characterized by ongoing, unrealistic, and excessive anxiety and worry about two or more life circumstances, to a degree that is pervasive and does not respond to either reassurance or contrary evidence. The following physical symptoms may be reported but do not have the sudden onset or intensity of panic attacks:

- Motor tension (restlessness, muscle tension, and being easily fatigued).
- Autonomic hyperactivity (shortness of breath, heart palpitations, sweating, and dizziness).
- Vigilance in scanning (feeling keyed up and on edge, irritability, and having exaggerated startle responses).

#### Obsessive-compulsive disorder

Obsessive-compulsive disorder (OCD) is characterized by persistent thoughts, ideas, or images (obsessions) and by repetitive, purposeful, and intentional behaviors (compulsions) that a person performs to manage his or her intense distress. To qualify as OCD, the obsessive thoughts and compulsive behaviors must be time-consuming and sufficiently distracting to interfere with the person’s ability to function in employment, academic, or social situations.

Patients with cancer who have a history of OCD may engage in compulsive behaviors such as hand washing, checking, or counting to such an extent that they cannot comply with treatment. For such patients, normal worry about the cancer diagnosis and prognosis can develop into full obsessive-compulsive symptoms and be severely disabling. OCD is most often managed with serotonergic antidepressant medications (selective serotonin reuptake inhibitors [SSRIs] and clomipramine) and CBT. Milder obsessive thoughts or use of rituals that do not interfere with treatment might be addressed with CBT, but medications are not indicated. This disorder is rare in cancer patients who do not have a premorbid history of some type of anxiety disorder.

#### Health anxiety disorder

Cancer survivors have been known to develop health anxiety disorder related to their fears of recurrence, including:[18]

- Hypervigilance to potential physical symptoms.
- Somatization.
- Extreme focus on cancer status.
- Identification with the patient role in care settings.
- Requesting frequent care, even after high-maintenance care needs have ended (including, but not limited to, requests for additional office visits and premature maintenance scans).

Although research is ongoing, early clinical guidelines suggest that CBT and treatment with SSRIs may be beneficial.

A study conducted in posttreatment cancer-free survivors (N = 133) investigated the full spectrum of anxiety disorders using standardized diagnostic and dimensional assessments.[19] Only high-risk survivors—patients who had a positive screening result for anxiety symptoms in daily life and had confirmed at least moderate anxiety about cancer—were included. A link to cancer was evaluated by examining the timing of the onset of anxiety disorders relative to a cancer diagnosis. The study found that 58% of anxiety disorders started after a cancer diagnosis, and that 68% of survivors reported experiencing their first anxiety disorder episode. Common anxiety disorders in this high-risk group of cancer survivors included:[19]

- Generalized anxiety disorder (41%).
- Specific phobias (14%).
- Social anxiety disorder (13%).

Many survivors reporting generalized anxiety (74%) and social anxiety (62%) had onset of symptoms after a cancer diagnosis and associated their symptoms with cancer. Generalized anxiety was often triggered by cancer-related changes in perceived health and vulnerability, and social anxiety was associated with cancer-related changes in appearance, self-perceptions, and lack of social connectedness. In survivors with no history of anxiety disorders, lingering treatment-related side effects predicted the onset of the first anxiety disorder episode. In survivors with a history of anxiety disorders, a higher cancer stage predicted development of anxiety disorder symptoms.[19]

### Screening and Assessment

Effective management of anxiety disorders begins with a thorough assessment and an accurate diagnosis. The normal fears and uncertainties associated with cancer are often intense. Frequently not clear is the distinction between normal fears and fears that are more severe and reach the criteria for an anxiety disorder. For more information, see Table 3.[14]

To assess the severity of anxiety, it is important to understand how much the symptoms of anxiety interfere with activities of daily living. Screening for anxiety could include a brief self-report questionnaire that, if a defined cutoff score is exceeded, could then be followed by a more-thorough clinical interview. A variety of general screening questionnaires have been used to identify distress. Other anxiety-specific self-report questionnaires (e.g., State-Trait Anxiety Inventory) have also been used, and a questionnaire for the assessment of prostate cancer–related anxiety has been developed and validated.[2,20,21] For more information, see the Self-Report Screening Instruments section.

The following list of symptoms is designed to distinguish common or normal worry from more-serious symptoms of anxiety. When patients report the more-serious symptoms, referral to a qualified mental health professional may be warranted.

Table 3. Common Worry versus Anxiety Disorders^a^

Symptoms of Common or Normal Worry | More-Serious Symptoms of Anxiety Disorders
Worry comes and goes. | Worry seems constant.
Has some difficulty in concentrating. | Is unable to concentrate.
Is able to "turn off thoughts" most of the time. | Is unable to “turn off thoughts” most of the time.
Has occasional trouble falling asleep. | Has trouble falling asleep and/or wakes up early most nights.
Has occasional crying spells that seem to provide some relief. | Has frequent crying spells that interfere with daily activities.
Fear and apprehension are clearly connected to an upcoming event (e.g., start of treatment, doctor’s appointment, or receipt of test results). | Fear and apprehension are “free floating” and seem to be present most of the time.
Has few, if any, physical symptoms (e.g., racing heart, dry mouth, shaky hands, or restlessness). | Has many physical symptoms (e.g., racing heart, dry mouth, shaky hands, restlessness, fidgetiness, or feeling keyed up).
Has ways to reduce anxiety (e.g., distraction by staying busy). | Has few, if any, ways to reduce anxiety.

^a^Adapted from Nicholas.[22]

### Interventions

Treatment options should consider the patient's quality of life and not be based solely on the disorder. When anxiety is situational (i.e., produced by pain, another underlying medical condition, a hormone-secreting tumor, or a side effect of medication), prompt treatment of the cause usually leads to immediate control of anxiety symptoms.[1]

Initial management of anxiety includes providing adequate information and support to the patient. Initial symptoms, which may warrant a psychiatric or psychological consultation, may first be reported to the primary oncologist or surgeon.[23][Level of evidence: IV]

#### Psychosocial interventions

Psychosocial approaches to the management of anxiety include the following:[24]

- Combinations of CBT techniques.
- Insight-oriented psychotherapy.
- Crisis intervention.
- Couple and family therapy.
- Group therapy.
- Self-help groups.
- Relaxation-based interventions.

Hypnosis, meditation, progressive relaxation, guided imagery, and biofeedback can be used to treat anxiety symptoms that are associated with the following:

- Painful procedures.
- Pain syndromes.
- Crisis situations.
- Anticipatory fears.
- Depressive syndromes.

Combining different approaches can be beneficial for some patients. Referring patients who may be struggling with anxiety disorders for full assessment and psychological treatment will enhance participation in care, improve quality of life, and reduce the pain experience.[25,26] For more information, see the Psychosocial Interventions for Distress section.

One study of 509 recurrence-free breast cancer survivors at 5 to 9 years posttreatment examined the usefulness of a comprehensive intervention that combined positive coping strategies based on CBT (e.g., calming self-talk or relaxation) with education about the disease, treatment, and potential side effects.[27] Findings from this study indicated that women in the intervention group (n = 244) regularly used the intervention components to deal with triggers of fears of breast cancer recurrence and long-term treatment side effects. Most women in the intervention group found the strategies helpful.[27][Level of evidence: I]

Preliminary evidence suggests racial differences in the use and benefit of specific coping strategies (e.g., religious coping strategies, such as prayer and hopefulness, are used more by African American women and provide greater benefit for these women).[27][Level of evidence: I];[28][Level of evidence: II]

#### Pharmacological interventions

Patients with cancer often have symptoms of both anxiety and depression caused by stressors related to cancer treatment. Such symptoms of distress often are resolved with psychological support alone; however, in some cases, pharmacological interventions are required. For a list of symptoms of anxiety disorders possibly requiring pharmacological treatment, see Table 3.

Pharmacological treatment options for anxiety disorders are based on evidence from studies conducted in patients without cancer because of the lack of such studies in patients with cancer. However, some of these medications have been used for several decades to treat anxiety symptoms in patients with cancer. The treatment options and their use in the situations described below are also based on clinical experience with these agents in patients with cancer.

The use of medications to treat anxiety disorders is considered when patients experience more-severe symptoms or when their responses to psychosocial interventions are inadequate. When counseling resources are not available or the patient declines them, medication may be considered sooner rather than later. In certain cases, medications are started simultaneously with psychosocial interventions when it is likely that psychosocial support alone will be inadequate to provide relief or to provide it soon enough.

Pharmacological interventions can be used short term or long term, depending on individual patient and illness factors, including the following:

- Severity of anxiety symptoms.
- Level of functional/social impairment.
- Psychiatric history.
- Continued presence of cancer.
- Cancer treatment–related factors contributing to anxiety directly or indirectly (e.g., high-intensity or long-term cancer treatments or treatment with agents known to cause to psychiatric symptoms [e.g., cytokines]).

Specific anxiety medications, such as the benzodiazepines listed in Table 4, are frequently used alone or in combination with psychological approaches to relieve anxiety symptoms. These medications are effective in the acute treatment of anxiety disorders because of their rapid onset of action. They are frequently used as monotherapy or as adjunctive agents in the short-term management (<4 months) of anxiety disorders. Their long-term use (>4 months) is limited by the potential for abuse and dependence and by their lack of antidepressant effects, as depression is often comorbid with anxiety disorders. Some indications and safety considerations for the use of benzodiazepines in patients with cancer include the following:[29,30]

- Short-acting benzodiazepines, such as alprazolam and lorazepam, can be effectively used to provide short-term relief at specific points in the cancer continuum of diagnosis, treatment, and recurrence. Examples of such short-term use include the treatment of anxiety during diagnostic procedures (e.g., certain radioimaging procedures) and about pending test results (e.g., for yearly mammograms in patients with a history of breast cancer).
- Cancer treatments, such as intensive chemotherapeutic regimens, can cause significant physical and emotional distress and exacerbate anxiety. Short-acting or intermediate-acting agents (e.g., clonazepam) can provide significant relief of anxiety and other symptoms, such as insomnia secondary to anxiety, during active cancer treatments.
- Longer-acting medications (e.g., diazepam and clorazepate) should generally be avoided because of their long half-lives. These medications can cause or exacerbate cognitive impairment, disorientation, and drowsiness because of their potential for accumulation.
- Patients with medical conditions such as delirium can present with anxiety and agitation. Benzodiazepine use in patients with such conditions is contraindicated because these agents can cause or exacerbate confusion and disorientation.
- All patients, especially older adult patients, receiving benzodiazepines should be closely monitored for cognitive impairment, daytime sedation, and fall risks. Use of these agents should be optimized in patients who are older, have multiple comorbidities or liver disease, or are taking multiple medications.
- Use of these agents should be closely monitored and optimized in patients receiving other sedating medications, central nervous system depressants, or agents with potential for causing respiratory depression (e.g., opiates).
- It is important to continuously monitor and reevaluate anxiety symptoms in all patients receiving benzodiazepines. Use of these medications can be tapered off if anxiety symptoms resolve after cancer treatment ends.
- In some patients, the use of benzodiazepines is continued (as monotherapy or adjunctive treatment) over a longer period (>4 months) because of persistent and debilitating anxiety symptoms. It is important to monitor the development of tolerance, abuse, and dependence issues as well as comorbid depressive symptoms in such patients. Long-term and sometimes chronic use of these agents might be indicated in a subpopulation of patients, with close monitoring and frequent risk-benefit assessments. Persistent (after 3 or 4 months) anxiety symptoms frequently lead to depression. Patients with persistent anxiety symptoms with or without depression might benefit from alternative treatments (e.g., paroxetine, sertraline).

Table 4. Pharmaceutical Treatments for Anxiety in Cancer Patients^a^

Benzodiazepines | • Use acutely, then taper off as tolerated.
Drug^b^ | Starting Dose (Range) | Comment(s) | Reference(s)
Alprazolam | 0.25–0.5 mg tid (≤4 mg/d) | Available in sustained-release form. | [33][Level of evidence: I]
Chlordiazepoxide | 5–10 mg tid–qid | No maximum dose listed. | [33][Level of evidence: I]
Chlordiazepoxide | 5–10 mg tid–qid | Titrate carefully >40 mg/d. | [33][Level of evidence: I]
Clonazepam | 0.125–0.25 mg bid–tid (≤4 mg/d) | More commonly used. | [33][Level of evidence: II]
Clorazepate | 30 mg/d in 2–3 doses (≤60 mg/d) | | [33][Level of evidence: I]
Diazepam | 2–10 mg bid–qid | No maximum dose listed. | [33][Level of evidence: I]
Diazepam | 2–10 mg bid–qid | Titrate carefully >40 mg/d. | [33][Level of evidence: I]
Lorazepam | 0.5–1 mg bid–tid (≤10 mg/d) | Preferred in liver disease. | [33][Level of evidence: I]
Lorazepam | 0.5–1 mg bid–tid (≤10 mg/d) | More commonly used. | [33][Level of evidence: I]
Oxazepam | 10–15 mg tid–qid | No maximum dose listed. | [33][Level of evidence: I]
Oxazepam | 10–15 mg tid–qid | Titrate carefully >120 mg/d. | [33][Level of evidence: I]
Oxazepam | 10–15 mg tid–qid | Preferred in liver disease. | [33][Level of evidence: I]
Antidepressants | • Use if long-term therapy is needed.
Antidepressants | • Use with caution with tamoxifen because of CYP2D6 interactions.
Drug^b^ | Starting Dose (Range) | Comment(s) | Reference
Citalopram | 10–40 mg/d | QTc prolongation. | [33][Level of evidence: II]
Citalopram | 10–40 mg/d | Preferred with tamoxifen. | [33][Level of evidence: II]
Desipramine | 25–200 mg/d | Use with caution in older adult patients. | [33][Level of evidence: III]
Duloxetine | 20–60 mg/d | | [33][Level of evidence: I]
Escitalopram | 5–20 mg/d | QTc prolongation. | [33][Level of evidence: II]
Escitalopram | 5–20 mg/d | Preferred with tamoxifen. | [33][Level of evidence: II]
Fluoxetine | 10–60 mg/d | Do not use with tamoxifen. | [33][Level of evidence: II]
Imipramine | 10–200 mg/d | Use with caution in older adult patients. | [33][Level of evidence: III]
Mirtazapine | 7.5–45 mg/d | | [33][Level of evidence: III]
Paroxetine | 10–40 mg/d | Do not use with tamoxifen. | [33][Level of evidence: I]
Sertraline | 25–200 mg/d | | [33][Level of evidence: I]
Venlafaxine | 37.5–225 mg/d | | [33][Level of evidence: I]
Other Drugs
Drug^b^ | Starting Dose (Range) | Comment(s) | Reference
Buspirone | 7.5 mg bid | ≤30 mg/d for anxiety. | [33][Level of evidence: I]
Hydroxyzine | 50–100 mg qid | | [33][Level of evidence: I]
Antipsychotics | • Consider for treatment-refractory anxiety.
Antipsychotics | • Most associated with significant weight gain.
Antipsychotics | • Also evaluate for metabolic syndrome, cardiovascular and cerebrovascular side effects.
Antipsychotics | • Risk of QTc prolongation and extrapyramidal side effects.
Drug^b^ | Starting Dose (Range) | Comment(s) | Reference
Aripiprazole | 2–10 mg/d | Titrate carefully >15 mg/d. | [33][Level of evidence: II]
Haloperidol | 0.5–2 mg bid–tid | | [33][Level of evidence: II]
Olanzapine | 2.5–10 mg/d | | [33][Level of evidence: II]
Quetiapine | 12.5–25 mg/d | May titrate >300 mg/d. | [33][Level of evidence: I]
Quetiapine | 12.5–25 mg/d | Benefit seen in some trials. | [33][Level of evidence: I]
Risperidone | 0.5–1 mg qd–bid | Titrate carefully >2 mg/d. | [33][Level of evidence: I]

bid = twice a day; CYP = cytochrome P450 enzyme; qd = once a day; qid = 4 times a day; tid = 3 times a day.

^a^Adapted from Lorenz et al.,[31] Traeger et al.,[32] and Lexicomp.[33]

^b^For dosing information for antidepressants used to treat anxiety, see Depression.

The choice of a benzodiazepine depends on the following:

- Duration of action that is best suited to the patient.
- Desired rapidity of onset.
- Route of administration available.
- Presence or absence of active metabolites.
- Metabolic problems.

Dosing schedules depend on patient tolerance and require individual titration. The shorter-acting benzodiazepines (alprazolam and lorazepam) are given 3 to 4 times per day. Short-acting benzodiazepines, particularly those that can be administered by multiple routes (lorazepam and diazepam), are effective for high levels of distress. Benzodiazepines decrease daytime anxiety and reduce insomnia. The most common side effects of benzodiazepines are dose dependent and are controlled by titrating the dose to avoid drowsiness, confusion, motor incoordination, and sedation. For more information, see Sleep Disorders.

All benzodiazepines can cause some degree of respiratory depression, which is generally minimal in patients who have not used benzodiazepines in the past. Benzodiazepines should be used cautiously (or not at all) in cases of respiratory impairment.

Standard precautions should be considered when any sedative is used in patients who have borderline respiratory function. Ongoing assessment of this population is important. Low doses of the antihistamine hydroxyzine (25 mg, 2–3 times a day) can be used safely in such situations. In patients with hepatic dysfunction, it is best to use short-acting benzodiazepines that are metabolized primarily by conjugation and excreted by the kidneys (e.g., oxazepam, temazepam, or lorazepam). Another advantage of using lorazepam is its lack of active metabolites. Conversely, other benzodiazepines should be selected in cases of renal dysfunction.

SSRIs (e.g., fluoxetine and sertraline) and serotonin-norepinephrine reuptake inhibitors (SNRIs) (e.g., venlafaxine) are considered first-line pharmacotherapy for long-term management of anxiety disorders. SSRIs and SNRIs are also effective in the treatment of depressive symptoms frequently comorbid with persistent anxiety disorders. SSRIs and SNRIs can take approximately 4 to 6 weeks to take effect because of their slow onset of action. Benzodiazepines are frequently used as adjunctive agents to stabilize symptoms in the initial period of treatment with SSRIs and SNRIs.

Atypical antidepressants (e.g., mirtazapine) are sometimes used to treat anxiety disorders because of their added effects on comorbid symptoms, such as insomnia. Older medications, such as tricyclic antidepressants (e.g., imipramine and clomipramine) and monoamine oxidase inhibitors (e.g., phenelzine), are also effective in treating anxiety disorders. The use of antidepressants in clinical practice is limited by their unfavorable side effects, poorer tolerability, and higher risks of toxicity.[34]

For more information, see the Suicide Risk in Cancer Patients section in Depression.

Buspirone, a nonbenzodiazepine, is useful in patients who have not previously been treated with a benzodiazepine and in those who may abuse benzodiazepines (e.g., those with a history of illicit substance abuse or alcoholism). Buspirone is also useful in the geriatric population to augment fluoxetine for the treatment of anxiety and depression. The beginning dose is 5 mg 3 times a day and can be increased to 15 mg 3 times a day. Buspirone can also be given twice a day.

The use of specific classes of medications is considered for managing treatment-refractory anxiety symptoms or in certain clinical situations. Low-dose neuroleptics (e.g., thioridazine, 10 mg 3 times a day, and risperidone, 1 mg twice a day) are used to treat severe anxiety when an adequate dose of a benzodiazepine is ineffective or if the patient might be expected to respond poorly to benzodiazepines (e.g., patients with brain metastases). Low-dose neuroleptics can also be used when benzodiazepines are not helpful or when delirium, dementia, or other complications are possible. Low-dose anticonvulsants (e.g., pregabalin, 200 mg per day) are sometimes used to treat severe treatment-resistant anxiety when other medications are ineffective or contraindicated because of certain associated risks.[34] Generally, the use of neuroleptics or anticonvulsants is considered only after adequate trials of several first-line agents (SSRIs, SNRIs, and benzodiazepines) because of their significant side effects and potential for drug-drug interactions with these agents. Consultation with a psychiatric clinician is strongly recommended before these medications are used, with direct involvement of a psychiatric clinician or the management of patients taking these medications.

The presence or absence of specific psychiatric or medical comorbidities is frequently a critical factor in the selection of pharmacological treatments. Pharmacokinetic and pharmacodynamic interactions with other medications are also important factors to consider. Examples of factors and clinical situations driving the selection of pharmacological treatments include the following:

- When depressive symptoms are comorbid with anxiety, treatment with SSRIs, SNRIs, or other antidepressants is strongly considered.
- When neuropathic pain is comorbid with anxiety symptoms, specific antidepressants with known efficacy in treating neuropathic pain (e.g., duloxetine and venlafaxine) are considered.
- When hot flashes are comorbid with anxiety symptoms, specific agents with known efficacy in treating hot flashes (e.g., venlafaxine) are considered.
- Specific medications with known side effects (e.g., nausea with duloxetine or risk of sedation with mirtazapine) are avoided when patients are already experiencing these side effects from their cancer treatments and because of the possible exacerbation of these side effects.
- Patients who are treated with CYP2D6 inhibitors (e.g., paroxetine) and tamoxifen may be at risk of significant drug-drug interactions. For more information, see Hot Flashes and Night Sweats.

No pharmacological treatment studies have been conducted in children and adolescents with cancer. Furthermore, evidence for pharmacological treatment of anxiety disorders in pediatric patients without cancer is also limited. One meta-analysis of pediatric antidepressant clinical trials [35][Level of evidence: I] found antidepressants efficacious compared with placebo to treat anxiety disorders, with the strongest effects in non-OCD anxiety disorders and intermediate effects in OCD. For a discussion of the risk of suicidal ideation and suicide attempt associated with antidepressant use, see Suicide Risk in Cancer Patients in Depression.

In general, patients with cancer need to be encouraged to take enough medication to relieve anxiety. Medications are readily tapered and discontinued when symptoms subside. Concerns about addiction are exaggerated in patients with cancer and often interfere with adequate symptom relief.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Breitbart W: Identifying patients at risk for, and treatment of major psychiatric complications of cancer. Support Care Cancer 3 (1): 45-60, 1995.7697303 95211391
Stark D, Kiely M, Smith A, et al.: Anxiety disorders in cancer patients: their nature, associations, and relation to quality of life. J Clin Oncol 20 (14): 3137-48, 2002.12118028 22113136
Schag CA, Heinrich RL: Anxiety in medical situations: adult cancer patients. J Clin Psychol 45 (1): 20-7, 1989.2925881 89175498
Mitchell AJ, Chan M, Bhatti H, et al.: Prevalence of depression, anxiety, and adjustment disorder in oncological, haematological, and palliative-care settings: a meta-analysis of 94 interview-based studies. Lancet Oncol 12 (2): 160-74, 2011.21251875
Razavi D, Stiefel F: Common psychiatric disorders in cancer patients. I. Adjustment disorders and depressive disorders. Support Care Cancer 2 (4): 223-32, 1994.8087440 94373348
Maguire P, Faulkner A, Regnard C: Managing the anxious patient with advancing disease--a flow diagram. Palliat Med 7 (3): 239-44, 1993.8261191 94084395
Fischer DJ, Villines D, Kim YO, et al.: Anxiety, depression, and pain: differences by primary cancer. Support Care Cancer 18 (7): 801-10, 2010.19685346
Suskin JA, Paul S, Stuckey AR, et al.: Risk factors for worse anxiety trajectories among patients undergoing cancer chemotherapy. Support Care Cancer 31 (1): 32, 2022.36517706
Nordin K, Glimelius B: Predicting delayed anxiety and depression in patients with gastrointestinal cancer. Br J Cancer 79 (3-4): 525-9, 1999.10027324 99149570
Green BL, Krupnick JL, Rowland JH, et al.: Trauma history as a predictor of psychologic symptoms in women with breast cancer. J Clin Oncol 18 (5): 1084-93, 2000.10694561 20160755
Friedman LC, Lehane D, Webb JA, et al.: Anxiety in medical situations and chemotherapy-related problems among cancer patients. J Cancer Educ 9 (1): 37-41, 1994.8204456 94263775
Partridge A, Adloff K, Blood E, et al.: Risk perceptions and psychosocial outcomes of women with ductal carcinoma in situ: longitudinal results from a cohort study. J Natl Cancer Inst 100 (4): 243-51, 2008.18270338
Hackett TP, Cassem NH: Massachusetts General Hospital Handbook of General Hospital Psychiatry. 2nd ed. PSG, 1987.
Massie MJ: Anxiety, panic, and phobias. In: Holland JC, Rowland JH, eds.: Handbook of Psychooncology: Psychological Care of the Patient With Cancer. Oxford University Press, 1989, pp 300-9.
Velikova G, Selby PJ, Snaith PR, et al.: The relationship of cancer pain to anxiety. Psychother Psychosom 63 (3-4): 181-4, 1995.7624464 95350311
Glover J, Dibble SL, Dodd MJ, et al.: Mood states of oncology outpatients: does pain make a difference? J Pain Symptom Manage 10 (2): 120-8, 1995.7730684 95248160
Wilcox JA: Pituitary microadenoma presenting as panic attacks. Br J Psychiatry 158: 426-7, 1991.1645208 91242968
Stark DP, House A: Anxiety in cancer patients. Br J Cancer 83 (10): 1261-7, 2000.11044347
Arch JJ, Genung SR, Ferris MC, et al.: Presence and predictors of anxiety disorder onset following cancer diagnosis among anxious cancer survivors. Support Care Cancer 28 (9): 4425-4433, 2020.31925530
Roth AJ, Rosenfeld B, Kornblith AB, et al.: The memorial anxiety scale for prostate cancer: validation of a new scale to measure anxiety in men with prostate cancer. Cancer 97 (11): 2910-8, 2003.12767107 22650530
Roth A, Nelson CJ, Rosenfeld B, et al.: Assessing anxiety in men with prostate cancer: further data on the reliability and validity of the Memorial Anxiety Scale for Prostate Cancer (MAX-PC). Psychosomatics 47 (4): 340-7, 2006 Jul-Aug.16844894
Nicholas DR: Emotional Side Effects of Cancer: Distinguishing Normal Distress from Mental Disorders [brochure]. Ball Memorial Hospital and Ball State University, 2008.
Hinshaw DB, Carnahan JM, Johnson DL: Depression, anxiety, and asthenia in advanced illness. J Am Coll Surg 195 (2): 271-7; discussion 277-8, 2002.12168975 22158655
Montazeri A, Jarvandi S, Haghighat S, et al.: Anxiety and depression in breast cancer patients before and after participation in a cancer support group. Patient Educ Couns 45 (3): 195-8, 2001.11722855 21580372
Brown LF, Kroenke K, Theobald DE, et al.: The association of depression and anxiety with health-related quality of life in cancer patients with depression and/or pain. Psychooncology 19 (7): 734-41, 2010.19777535
Osborn RL, Demoncada AC, Feuerstein M: Psychosocial interventions for depression, anxiety, and quality of life in cancer survivors: meta-analyses. Int J Psychiatry Med 36 (1): 13-34, 2006.16927576
Gil KM, Mishel MH, Germino B, et al.: Uncertainty management intervention for older African American and Caucasian long-term breast cancer survivors. J Psychosoc Oncol 23 (2-3): 3-21, 2005.16492649
Reddick BK, Nanda JP, Campbell L, et al.: Examining the influence of coping with pain on depression, anxiety, and fatigue among women with breast cancer. J Psychosoc Oncol 23 (2-3): 137-57, 2005.16492656
Stiefel F, Berney A, Mazzocato C: Psychopharmacology in supportive care in cancer: a review for the clinician. I. Benzodiazepines. Support Care Cancer 7 (6): 379-85, 1999.10541978
Michael Kaplan E, DuPont RL: Benzodiazepines and anxiety disorders: a review for the practicing physician. Curr Med Res Opin 21 (6): 941-50, 2005.15969894
Lorenz RA, Jackson CW, Saitz M: Adjunctive use of atypical antipsychotics for treatment-resistant generalized anxiety disorder. Pharmacotherapy 30 (9): 942-51, 2010.20795849
Traeger L, Greer JA, Fernandez-Robles C, et al.: Evidence-based treatment of anxiety in patients with cancer. J Clin Oncol 30 (11): 1197-205, 2012.22412135
Lexicomp Online. Hudson, Ohio: Lexi-Comp, Inc., 2025. Available online with subscription (https://www.wolterskluwer.com/en/solutions/uptodate/enterprise/lexidrug). Last accessed Jan. 15, 2025.
Hoffman EJ, Mathew SJ: Anxiety disorders: a comprehensive review of pharmacotherapies. Mt Sinai J Med 75 (3): 248-62, 2008 May-Jun.18704983
Bridge JA, Iyengar S, Salary CB, et al.: Clinical response and risk for reported suicidal ideation and suicide attempts in pediatric antidepressant treatment: a meta-analysis of randomized controlled trials. JAMA 297 (15): 1683-96, 2007.17440145

## Considerations for Pediatric Patients and Their Families

### Psychological Adjustment

Treatment of childhood cancer is a highly stressful experience, challenging and disruptive to children and their family members. It is often assumed that children undergoing cancer treatment are at significantly higher risk for depression, anxiety, and other indicators of psychological distress. However, the empirical evidence to support this assumption is weak. Overall, studies suggest that children treated for cancer and children who are long-term survivors of cancer experience few significant psychological adjustment problems.[1-3]

There is evidence that children experience distress during cancer treatment. Distress appears to be most significant early in therapy, typically when frequent hospitalizations are necessary, with less distress occurring over time.[4,5] One group of 39 families of children newly diagnosed with leukemia was compared with a group of 49 families of healthy children. While parents and the children treated for cancer reported higher levels of distress immediately after diagnosis, these levels of distress decreased over 4 years of follow-up, and there were no significant differences in psychological distress compared with the healthy comparison cohort.[4] Similar findings have been reported across cultures.[6]

The validity of obtaining accurate reports of psychological distress in this population has been questioned. One investigation examined whether psychological defensiveness might mask the reporting of depression and other symptoms of psychological distress. Researchers studied 107 children treated for cancer and 422 healthy controls, who completed a series of measures of depression and anxiety.[7][Level of evidence: II] Children treated for cancer reported significantly fewer depressive symptoms than did healthy children, and defensive style was not related to reports of depression. Another study of 205 children and 321 parents of children with cancer, asthma, or no significant health problem also found no significant levels of depression in children treated for cancer. However, parents of children with cancer attributed more cheerful characteristics to their children than the parents of children in the other groups.[8][Level of evidence: II]

Studies have reported no differences from controls on the following measures:

- Self-esteem.[9,10]
- Hopefulness.[9]
- Depression, anxiety, or loneliness.[10]

One group of investigators [10] found that teachers perceived children with cancer as more social and less aggressive, and peers rated them as less aggressive and having greater social acceptance than other peers. It may make a difference who is reporting: parents of children report more limitations in their children than the children themselves,[11] although children do report lower satisfaction with athletic competence than their peers.[10]

#### Differences in adjustment

Diagnosis and type of treatment appear to make a difference in adjustment in specific subgroups of children with cancer.[12]

##### Solid tumors

Children treated for solid tumors not involving the central nervous system (CNS) appear to have minimal psychological distress, which is maintained after treatment.[13]

##### Acute lymphoblastic leukemia or lymphoma

Children treated for acute lymphoblastic leukemia or lymphoma report poorer emotional functioning, cognitive skills, autonomy, and family interaction than children treated for non-CNS solid tumors.[13]

##### CNS tumors

For children whose disease or treatment directly involves the CNS, the risk of developing social and emotional problems appears much greater. Children with brain tumors are seen by their peers as being sick, fatigued, absent from school, and socially isolated and are less likely to be viewed as friends by their peers.[14]

##### Stem cell transplant

Children receiving hematopoietic stem cell transplant (HSCT) are likely to experience declines in both social competence and self-concept over time.[15]

##### Ethnicity

Ethnicity can also play a role in quality of life.[16]

##### Family factors

Family factors appear to play a large role in adjustment of children with cancer, with family cohesion and expressiveness associated with better outcomes and family conflict associated with poorer outcomes, particularly for children experiencing more-intensive treatment.[15] Preschool-age children are more likely than adolescents to experience higher levels of externalizing behavior problems (e.g., aggression, impulsivity, or disruptive behavior) during treatment, but overall health-related quality of life (HRQL) reported by parents is better for younger children than for adolescents.[17] Age may also serve as a mediator in the approach to coping and perceived level of control experienced by children being treated for cancer. One group of researchers found that children with cancer reported significantly more avoidant coping strategies than healthy children, regardless of age.[18] However, another research group found that the relationship between perceived control and problem-focused or emotion-focused coping (problem-focused coping related to higher appraisals of control) was mediated by age.[19] Few studies has been conducted in this area, and there are likely a number of additional mediators of adjustment-coping relationships that have not yet been examined.

###### Siblings

The challenges of dealing with the diagnosis and treatment of childhood cancer also has implications for the coping and adjustment of siblings. During treatment, siblings of children with cancer may report:

- Higher levels of anxiety and loneliness than siblings of healthy children.[20][Level of evidence: II]
- Post-traumatic distress symptoms (reported by approximately 50% of siblings).[21][Level of evidence: II]
- Distress about family disruptions and separations.[21]
- Lack of attention associated with the focus of other family members on the ill child.[21]
- Negative interactions with family members.[21]
- Fear of the sibling’s death.[21]

Siblings of children with cancer also report becoming more compassionate and perceiving that their families are drawn closer together through the experience.[22]

The risk to families increases with the following conditions:

- Younger patient age.[22]
- Longer duration of cancer treatment.[20]
- Whether the child with cancer dies.[23]

For siblings of children who undergo allogeneic HSCT, the risk of anxiety and lower self-esteem is higher for siblings who serve as hematopoietic stem cell donors, while nondonors are at higher risk of developing school problems.[24] Social support programs such as sibling groups [25] or summer camp experiences [26] appear to reduce anxiety and improve self-esteem in siblings of children treated for cancer.

##### Childhood Cancer Survivor Study

The Childhood Cancer Survivor Study (CCSS) is a large, ongoing, multicenter study of more than 10,000 long-term survivors of childhood cancer and a comparison sibling control population. Using extensive survey methodology that links reports of current functioning to diagnosis, types of treatment, and other health factors associated with cancer and its treatment, the CCSS has selectively looked at long-term adjustment in large samples of young adults treated for similar childhood cancers. In one CCSS report, 2,778 survivors of solid tumors diagnosed in childhood and 2,925 siblings were surveyed using a standardized, long-term, follow-up questionnaire. Symptoms associated with depression, somatization, and anxiety were reported, along with demographic, health, and medical information. Cancer survivors reported few, if any, symptoms of psychological distress, although survivors of solid-tumor cancers reported higher levels of global distress than their siblings. There were no differences on these measures from population norms. For both cancer survivors and their siblings, female gender, lower education and income attainment, perceived poor health status, and reports of current health problems were all associated with higher levels of psychological distress symptoms.[27][Level of evidence: II]

The CCSS also reported positive findings for young adults who are survivors of leukemias and lymphomas. Follow-up questionnaires about psychological adjustment were administered to 5,736 young adult survivors of leukemia, non-Hodgkin lymphoma, and Hodgkin lymphoma and to 2,565 adult siblings. Survivors reported higher levels of depressive symptoms and somatic distress than siblings, but neither group's scores fell within the clinically significant range for the general population. Sociodemographic factors such as gender and socioeconomic status were associated with reports of depressive symptoms, regardless of treatment status. The only disease-related factor associated with psychological distress was intensive chemotherapy, which was linked to an increase in somatic complaints.[2][Level of evidence: II] Similar outcomes were reported for survivors of brain cancers. Brain tumor survivors reported higher levels of depressive symptomatology than siblings, but the rates for both groups were similar to rates for the general population.[3][Level of evidence: II] A summary of the main psychosocial outcomes reported by the CCSS is available.[28][Level of evidence: II] Other reports from the CCSS address alcohol consumption,[29] the role of physical limitations on HRQL,[30][Level of evidence: II] fatigue, and sleep.[31]

### References

Eiser C, Hill JJ, Vance YH: Examining the psychological consequences of surviving childhood cancer: systematic review as a research method in pediatric psychology. J Pediatr Psychol 25 (6): 449-60, 2000.10980049
Zebrack BJ, Zeltzer LK, Whitton J, et al.: Psychological outcomes in long-term survivors of childhood leukemia, Hodgkin's disease, and non-Hodgkin's lymphoma: a report from the Childhood Cancer Survivor Study. Pediatrics 110 (1 Pt 1): 42-52, 2002.12093945
Zebrack BJ, Gurney JG, Oeffinger K, et al.: Psychological outcomes in long-term survivors of childhood brain cancer: a report from the childhood cancer survivor study. J Clin Oncol 22 (6): 999-1006, 2004.15020603
Sawyer M, Antoniou G, Toogood I, et al.: Childhood cancer: a 4-year prospective study of the psychological adjustment of children and parents. J Pediatr Hematol Oncol 22 (3): 214-20, 2000 May-Jun.10864052
Varni JW, Katz E: Stress, social support and negative affectivity in children with newly diagnosed cancer: a prospective transactional analysis. Psychooncology 6 (4): 267-78, 1997.9451746
Chao CC, Chen SH, Wang CY, et al.: Psychosocial adjustment among pediatric cancer patients and their parents. Psychiatry Clin Neurosci 57 (1): 75-81, 2003.12519458
Phipps S, Srivastava DK: Approaches to the measurement of depressive symptomatology in children with cancer: attempting to circumvent the effects of defensiveness. J Dev Behav Pediatr 20 (3): 150-6, 1999.10393071
Grootenhuis MA, Last BF, van der Wel M, et al.: Parents' attribution of positive characteristics to their children with cancer. Psychol Health 13: 67-81, 1998.
Ritchie MA: Self-esteem and hopefulness in adolescents with cancer. J Pediatr Nurs 16 (1): 35-42, 2001.11247523
Noll RB, Gartstein MA, Vannatta K, et al.: Social, emotional, and behavioral functioning of children with cancer. Pediatrics 103 (1): 71-8, 1999.9917442
Levi RB, Drotar D: Health-related quality of life in childhood cancer: discrepancy in parent-child reports. Int J Cancer Suppl 12: 58-64, 1999.10679872
Armstrong FD, Toledano SR, Miloslavich K, et al.: The Miami pediatric quality of life questionnaire: parent scale. Int J Cancer Suppl 12: 11-7, 1999.10679865
Calaminus G, Weinspach S, Teske C, et al.: Quality of life in children and adolescents with cancer. First results of an evaluation of 49 patients with the PEDQOL questionnaire. Klin Padiatr 212 (4): 211-5, 2000 Jul-Aug.10994553
Vannatta K, Gartstein MA, Short A, et al.: A controlled study of peer relationships of children surviving brain tumors: teacher, peer, and self ratings. J Pediatr Psychol 23 (5): 279-87, 1998.9782676
Phipps S, Mulhern RK: Family cohesion and expressiveness promote resilience to the stress of pediatric bone marrow transplant: a preliminary report. J Dev Behav Pediatr 16 (4): 257-63, 1995.7593661
Casillas JN, Zebrack BJ, Zeltzer LK: Health-related quality of life for Latino survivors of childhood cancer. J Psychosoc Oncol 24 (3): 125-45, 2006.17088244
Barrera M, Wayland LA, D’Agostino NM, et al.: Developmental differences in psychological adjustment and health-related quality of life in pediatric cancer patients. Child Health Care 32 (3): 215-32, 2003.
Phipps S, Fairclough D, Mulhern RK: Avoidant coping in children with cancer. J Pediatr Psychol 20 (2): 217-32, 1995.7760221
Sorgen KE, Manne SL: Coping in children with cancer: examining the goodness-of-fit hypothesis. Child Health Care 31 (3): 191-207, 2002.
Hamama R, Ronen T, Feigin R: Self-control, anxiety, and loneliness in siblings of children with cancer. Soc Work Health Care 31 (1): 63-83, 2000.10989875
Alderfer MA, Labay LE, Kazak AE: Brief report: does posttraumatic stress apply to siblings of childhood cancer survivors? J Pediatr Psychol 28 (4): 281-6, 2003.12730285
Sargent JR, Sahler OJ, Roghmann KJ, et al.: Sibling adaptation to childhood cancer collaborative study: siblings' perceptions of the cancer experience. J Pediatr Psychol 20 (2): 151-64, 1995.7760216
MacLeod KD, Whitsett SF, Mash EJ, et al.: Pediatric sibling donors of successful and unsuccessful hematopoietic stem cell transplants (HSCT): a qualitative study of their psychosocial experience. J Pediatr Psychol 28 (4): 223-30, 2003.12730279
Packman W: Psychosocial impact of pediatric BMT on siblings. Bone Marrow Transplant 24 (7): 701-6, 1999.10516671
Houtzager BA, Grootenhuis MA, Last BF: Supportive groups for siblings of pediatric oncology patients: impact on anxiety. Psychooncology 10 (4): 315-24, 2001 Jul-Aug.11462230
Murray JS: Self-concept of siblings of children with cancer. Issues Compr Pediatr Nurs 24 (2): 85-94, 2001 Apr-Jun.11817430
Zebrack BJ, Zevon MA, Turk N, et al.: Psychological distress in long-term survivors of solid tumors diagnosed in childhood: a report from the childhood cancer survivor study. Pediatr Blood Cancer 49 (1): 47-51, 2007.16755550
Zeltzer LK, Lu Q, Leisenring W, et al.: Psychosocial outcomes and health-related quality of life in adult childhood cancer survivors: a report from the childhood cancer survivor study. Cancer Epidemiol Biomarkers Prev 17 (2): 435-46, 2008.18268128
Lown EA, Goldsby R, Mertens AC, et al.: Alcohol consumption patterns and risk factors among childhood cancer survivors compared to siblings and general population peers. Addiction 103 (7): 1139-48, 2008.18554347
Ness KK, Gurney JG, Zeltzer LK, et al.: The impact of limitations in physical, executive, and emotional function on health-related quality of life among adult survivors of childhood cancer: a report from the Childhood Cancer Survivor Study. Arch Phys Med Rehabil 89 (1): 128-36, 2008.18164342
Mulrooney DA, Ness KK, Neglia JP, et al.: Fatigue and sleep disturbance in adult survivors of childhood cancer: a report from the childhood cancer survivor study (CCSS). Sleep 31 (2): 271-81, 2008.18274275

## Latest Updates to This Summary (02/27/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about normal adjustment issues, and the pathophysiology and treatment of psychosocial distress and the adjustment disorders. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Adjustment to Cancer are:

- Natalie Jacobowski, MD (Nationwide Children's Hospital)
- Jayesh Kamath, MD, PhD (University of Connecticut Health Center)
- Tammy I. Kang, MD, MSCE, FAAHPM (Texas Children's Pavilion for Women)
- Edward B. Perry, MD (VA Connecticut Healthcare System)
- Rachel A. Pozzar, PhD, RN (Dana-Farber Cancer Institute)
- Amy Wachholtz, PhD, MDiv, MS, ABPP (University of Colorado)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Adjustment to Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/feelings/anxiety-distress-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389397]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).